# Thyroid Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult thyroid cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Thyroid Cancer

Thyroid cancer includes the following four main types:

- Papillary.
- Follicular.
- Medullary.
- Anaplastic.

For clinical management of the patient, thyroid cancer is generally divided into the following two categories:[1]

1. Differentiated thyroid cancer, which includes well-differentiated tumors, poorly differentiated tumors, and undifferentiated tumors (papillary, follicular, or anaplastic).
2. Medullary thyroid cancer.

Well-differentiated tumors (papillary and follicular thyroid cancer) are highly treatable and usually curable. Poorly differentiated and undifferentiated thyroid tumors (anaplastic thyroid cancer) are less common, aggressive, metastasize early, and have a poorer prognosis. Medullary thyroid cancer is a neuroendocrine cancer that has an intermediate prognosis.

The thyroid gland may occasionally be the site of other primary tumors, including sarcomas, lymphomas, epidermoid carcinomas, and teratomas. The thyroid may also be the site of metastasis from other cancers, particularly of the lung, breast, and kidney.

### Incidence and Mortality

Estimated new cases and deaths from thyroid cancer in the United States in 2025:[2]

- New cases: 44,020.
- Deaths: 2,290.

Thyroid cancer affects women more often than men and usually occurs in people aged 25 to 65 years. The incidence of this malignancy has been increasing over the last decade. Thyroid cancer commonly presents as a so-called cold nodule. It is detected as a palpable thyroid gland during a physical examination and evaluated with iodine I 131 scans. Scintigraphy shows that the isotope is not taken up in an area of the gland. The overall incidence of cancer in a cold nodule is 12% to 15%, but it is higher in people younger than 40 years and in people with calcifications present on preoperative ultrasonography.[3,4]

### Anatomy

Thyroid gland tissue envelops the upper trachea just below the thyroid and cricoid cartilages that make up the larynx. The gland has an isthmus and often asymmetric right and left lobes; usually four parathyroid glands lie posteriorly. When swallowing, the thyroid may be felt to rise with the larynx—most commonly in the presence of a disease process.

Anatomy of the thyroid and parathyroid glands.

Anatomy of the thyroid and parathyroid glands; drawing shows the thyroid gland at the base of the throat near the trachea. An inset shows the front and back views. The front view shows that the thyroid is shaped like a butterfly, with the right lobe and left lobe connected by a thin piece of tissue called the isthmus. The back view shows the four pea-sized parathyroid glands. The larynx is also shown.

### Risk Factors

Patients with a history of radiation therapy administered in infancy or childhood for benign conditions of the head and neck (such as enlarged thymus, tonsils, or adenoids; or acne) have an increased risk of cancer and other abnormalities of the thyroid gland. In this group of patients, malignancies of the thyroid gland appear as early as 5 years after radiation therapy and may appear 20 or more years later.[5] Radiation exposure as a consequence of nuclear fallout has also been associated with a high risk of thyroid cancer, especially in children.[6-8]

Other risk factors for thyroid cancer include:[9]

- Family history of thyroid disease or multiple endocrine neoplasia (MEN) syndrome.
- A RET pathogenic variant.[2,10]
- A history of goiter.
- Female sex.
- Asian race.

### Diagnostic and Staging Evaluation

The following tests and procedures may be used in the diagnosis and staging of thyroid cancer:

- Physical examination and history.
- Laryngoscopy.
- Blood hormone studies.
- Blood chemistry studies.
- Ultrasonography.
- Computed tomography scan.
- Fine-needle aspiration biopsy of the thyroid.
- Surgical excision.

### Prognostic Factors for Well-Differentiated Thyroid Cancer

Age appears to be the single most important prognostic factor.[11] The prognosis for differentiated carcinoma (papillary or follicular) without extracapsular extension or vascular invasion is better for patients younger than 40 years.[11-15]

Patients considered at low risk according to age, metastases, extent, and size risk criteria include women younger than 50 years and men younger than 40 years without evidence of distant metastases. The low-risk group also includes older patients with primary papillary tumors smaller than 5 cm without evidence of gross extrathyroidal invasion, and older patients with follicular cancer without major capsular invasion or blood vessel invasion.[13] Using these criteria, a retrospective study of 1,019 patients showed that the 20-year survival rate was 98% for patients with low-risk disease and 50% for patients with high-risk disease.[13]

A retrospective surgical series of 931 previously untreated patients with differentiated thyroid cancer found that age older than 45 years, follicular histology, primary tumor larger than 4 cm (T2–T3), extrathyroidal extension (T4), and distant metastases were adverse prognostic factors.[16,17] Favorable prognostic factors included female sex, multifocality, and regional lymph node involvement.[16] However, other studies have shown that regional lymph node involvement had no effect [18,19] or had an adverse effect on survival.[14,15,20]

Another retrospective series of 1,807 patients found that the presence of distant metastases was most predictive of survival, followed by age.[21] An age cutoff of 55 years was identified as most predictive of survival. This led to an international multi-institutional validation of age 55 years as a cutoff for risk stratification in the American Joint Committee on Cancer/Union for International Cancer Control (AJCC/UICC) staging system for well-differentiated thyroid cancer. This analysis of 9,484 patients was responsible for the change in age cutoff from 45 years to 55 years in the AJCC Cancer Staging Manual, 8th edition, using AJCC/UICC staging for well-differentiated thyroid cancer.[22]

The prognostic significance of lymph node status is controversial. Use of sentinel lymph node biopsy may aid in identifying patients with occult metastases who might benefit from central neck dissection.[23]

Diffuse, intense immunostaining for vascular endothelial growth factor in patients with papillary cancer has been associated with a high rate of local recurrence and distant metastases.[24] An elevated serum thyroglobulin level correlates strongly with recurrent tumor when found in patients with differentiated thyroid cancer during postoperative evaluations.[25,26] Serum thyroglobulin levels are most sensitive when patients are hypothyroid and have elevated serum thyroid-stimulating hormone levels.[27] Expression of the TP53 tumor suppressor gene has also been associated with an adverse prognosis for patients with thyroid cancer.[28]

For more information, see the Clinical Features and Prognosis section of the Medullary Thyroid Cancer section and the Clinical Features and Prognosis section of the Anaplastic Thyroid Cancer section.

### References

LiVolsi VA: Pathology of thyroid disease. In: Falk SA: Thyroid Disease: Endocrinology, Surgery, Nuclear Medicine, and Radiotherapy. Lippincott-Raven, 1997, pp 127-175.
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Tennvall J, Biörklund A, Möller T, et al.: Is the EORTC prognostic index of thyroid cancer valid in differentiated thyroid carcinoma? Retrospective multivariate analysis of differentiated thyroid carcinoma with long follow-up. Cancer 57 (7): 1405-14, 1986.3948123 86133116
Khoo ML, Asa SL, Witterick IJ, et al.: Thyroid calcification and its association with thyroid carcinoma. Head Neck 24 (7): 651-5, 2002.12112538 22106054
Carling T, Udelsman R: Thyroid tumors. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 1457-72.
Pacini F, Vorontsova T, Molinaro E, et al.: Prevalence of thyroid autoantibodies in children and adolescents from Belarus exposed to the Chernobyl radioactive fallout. Lancet 352 (9130): 763-6, 1998.9737280 98407298
Cardis E, Kesminiene A, Ivanov V, et al.: Risk of thyroid cancer after exposure to 131I in childhood. J Natl Cancer Inst 97 (10): 724-32, 2005.15900042
Tronko MD, Howe GR, Bogdanova TI, et al.: A cohort study of thyroid cancer and other thyroid diseases after the chornobyl accident: thyroid cancer in Ukraine detected during first screening. J Natl Cancer Inst 98 (13): 897-903, 2006.16818853
Iribarren C, Haselkorn T, Tekawa IS, et al.: Cohort study of thyroid cancer in a San Francisco Bay area population. Int J Cancer 93 (5): 745-50, 2001.11477590 21369817
Salvatore G, Giannini R, Faviana P, et al.: Analysis of BRAF point mutation and RET/PTC rearrangement refines the fine-needle aspiration diagnosis of papillary thyroid carcinoma. J Clin Endocrinol Metab 89 (10): 5175-80, 2004.15472223
Mazzaferri EL: Treating differentiated thyroid carcinoma: where do we draw the line? Mayo Clin Proc 66 (1): 105-11, 1991.1988750 91109402
Grant CS, Hay ID, Gough IR, et al.: Local recurrence in papillary thyroid carcinoma: is extent of surgical resection important? Surgery 104 (6): 954-62, 1988.3194847 89058821
Sanders LE, Cady B: Differentiated thyroid cancer: reexamination of risk groups and outcome of treatment. Arch Surg 133 (4): 419-25, 1998.9565123 98224795
Staunton MD: Thyroid cancer: a multivariate analysis on influence of treatment on long-term survival. Eur J Surg Oncol 20 (6): 613-21, 1994.7995409 95087765
Mazzaferri EL, Jhiang SM: Long-term impact of initial surgical and medical therapy on papillary and follicular thyroid cancer. Am J Med 97 (5): 418-28, 1994.7977430 95068036
Shah JP, Loree TR, Dharker D, et al.: Prognostic factors in differentiated carcinoma of the thyroid gland. Am J Surg 164 (6): 658-61, 1992.1463119 93098375
Andersen PE, Kinsella J, Loree TR, et al.: Differentiated carcinoma of the thyroid with extrathyroidal extension. Am J Surg 170 (5): 467-70, 1995.7485734 96066944
Coburn MC, Wanebo HJ: Prognostic factors and management considerations in patients with cervical metastases of thyroid cancer. Am J Surg 164 (6): 671-6, 1992.1463122 93098378
Voutilainen PE, Multanen MM, Leppäniemi AK, et al.: Prognosis after lymph node recurrence in papillary thyroid carcinoma depends on age. Thyroid 11 (10): 953-7, 2001.11716043 21572128
Sellers M, Beenken S, Blankenship A, et al.: Prognostic significance of cervical lymph node metastases in differentiated thyroid cancer. Am J Surg 164 (6): 578-81, 1992.1463103 93098356
Nixon IJ, Kuk D, Wreesmann V, et al.: Defining a Valid Age Cutoff in Staging of Well-Differentiated Thyroid Cancer. Ann Surg Oncol 23 (2): 410-5, 2016.26215199
Nixon IJ, Wang LY, Migliacci JC, et al.: An International Multi-Institutional Validation of Age 55 Years as a Cutoff for Risk Stratification in the AJCC/UICC Staging System for Well-Differentiated Thyroid Cancer. Thyroid 26 (3): 373-80, 2016.26914539
Cunningham DK, Yao KA, Turner RR, et al.: Sentinel lymph node biopsy for papillary thyroid cancer: 12 years of experience at a single institution. Ann Surg Oncol 17 (11): 2970-5, 2010.20552407
Lennard CM, Patel A, Wilson J, et al.: Intensity of vascular endothelial growth factor expression is associated with increased risk of recurrence and decreased disease-free survival in papillary thyroid cancer. Surgery 129 (5): 552-8, 2001.11331447 21229812
van Herle AJ, van Herle KA: Thyroglobulin in benign and malignant thyroid disease. In: Falk SA: Thyroid Disease: Endocrinology, Surgery, Nuclear Medicine, and Radiotherapy. Lippincott-Raven, 1997, pp 601-618.
Ruiz-Garcia J, Ruiz de Almodóvar JM, Olea N, et al.: Thyroglobulin level as a predictive factor of tumoral recurrence in differentiated thyroid cancer. J Nucl Med 32 (3): 395-8, 1991.2005446 91171006
Duren M, Siperstein AE, Shen W, et al.: Value of stimulated serum thyroglobulin levels for detecting persistent or recurrent differentiated thyroid cancer in high- and low-risk patients. Surgery 126 (1): 13-9, 1999.10418587 99347141
Godballe C, Asschenfeldt P, Jørgensen KE, et al.: Prognostic factors in papillary and follicular thyroid carcinomas: p53 expression is a significant indicator of prognosis. Laryngoscope 108 (2): 243-9, 1998.9473076 98132418

## Cellular Classification of Thyroid Cancer

In thyroid cancer, cell type is an important determinant of prognosis and treatment. The thyroid has two cell types: follicular cells and parafollicular C cells. The management of thyroid cancer depends on the cell of origin and how well the integrity of the cell type is maintained. The four main types of thyroid cancer are divided into the following two categories for clinical management:[1]

Differentiated (follicular cell) thyroid cancers.
1. Well-differentiated.
  a. Papillary thyroid carcinoma.
  b. Follicular thyroid carcinoma.
    - Hürthle cell carcinoma, a variant of follicular carcinoma with a poorer prognosis.[2,3]
2. Poorly differentiated.
3. Undifferentiated.
  - Anaplastic thyroid carcinoma.

Parafollicular C cell thyroid cancers.
1. Medullary thyroid carcinoma.

Other types (not derived from thyroid cells).
1. Lymphoma.
2. Sarcoma.
3. Carcinosarcoma.

### References

LiVolsi VA: Pathology of thyroid disease. In: Falk SA: Thyroid Disease: Endocrinology, Surgery, Nuclear Medicine, and Radiotherapy. Lippincott-Raven, 1997, pp 127-175.
Kushchayeva Y, Duh QY, Kebebew E, et al.: Comparison of clinical characteristics at diagnosis and during follow-up in 118 patients with Hurthle cell or follicular thyroid cancer. Am J Surg 195 (4): 457-62, 2008.18070728
Mills SC, Haq M, Smellie WJ, et al.: Hürthle cell carcinoma of the thyroid: Retrospective review of 62 patients treated at the Royal Marsden Hospital between 1946 and 2003. Eur J Surg Oncol 35 (3): 230-4, 2009.18722077

## Stage Information for Thyroid Cancer

### Definitions of TNM

The American Joint Committee on Cancer has designated staging by the TNM (tumor, node, metastasis) classification to define thyroid cancer.[1,2] For definitions of TNM stages for each type of thyroid cancer, see the following sections:

- Stage Information for Papillary and Follicular Thyroid Cancer.
- Stage Information for Medullary Thyroid Cancer.
- Stage Information for Anaplastic Thyroid Cancer.

### References

Tuttle RM, Morris LF, Haugen BR, et al.: Thyroid--Differentiated and Anaplastic Carcinoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 873-90.
Rosen Je, Lloyd RV, Brierley JD, et al.: Thyroid--Medullary. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 891-901.

## Treatment Option Overview for Thyroid Cancer

Treatment options for thyroid cancer are described in Table 1.

Table 1. Treatment Options for Thyroid Cancer

Type of Thyroid Cancer | Disease Status | Treatment Options
Papillary and follicular | Localized/regional | Surgery
Papillary and follicular | Localized/regional | –Total thyroidectomy
Papillary and follicular | Localized/regional | –Lobectomy
Papillary and follicular | Localized/regional | RAI therapy
Papillary and follicular | Localized/regional | Thyroid-suppression therapy
Papillary and follicular | Localized/regional | EBRT
Papillary and follicular | Metastatic | Iodine-sensitive:
Papillary and follicular | Metastatic | RAI therapy
Papillary and follicular | Metastatic | Thyroid-suppression therapy
Papillary and follicular | Metastatic | Iodine-resistant:
Papillary and follicular | Metastatic | Thyroid-suppression therapy
Papillary and follicular | Metastatic | Targeted therapy
Papillary and follicular | Metastatic | Surgery
Papillary and follicular | Metastatic | EBRT
Papillary and follicular | Metastatic | Chemotherapy (under clinical evaluation)
Papillary and follicular | Metastatic | Clinical trials
Recurrent papillary and follicular thyroid cancer | | Surgery with or without postoperative RAI therapy
Recurrent papillary and follicular thyroid cancer | | Targeted therapy
Recurrent papillary and follicular thyroid cancer | | EBRT
Recurrent papillary and follicular thyroid cancer | | Chemotherapy
Recurrent papillary and follicular thyroid cancer | | Clinical trials
Medullary thyroid cancer | Localized disease | Total thyroidectomy
Medullary thyroid cancer | Localized disease | EBRT
Medullary thyroid cancer | Locally advanced and metastatic disease | Targeted therapy
Medullary thyroid cancer | Locally advanced and metastatic disease | Palliative chemotherapy
Anaplastic thyroid cancer | | Surgery
Anaplastic thyroid cancer | | EBRT
Anaplastic thyroid cancer | | Systemic therapy

T = primary tumor; N = regional lymph node; M = distant metastases; EBRT = external-beam radiation therapy; RAI = radioactive iodine.

## Papillary and Follicular Thyroid Cancer

### Clinical Features and Prognosis

The clinical features and prognosis of well-differentiated thyroid tumors vary by stage.

Most papillary cancers have some follicular elements. These follicular elements may outnumber the papillary formations, but they do not change the prognosis.

Follicular adenomas, which are characterized by their lack of invasion through the capsule into the surrounding thyroid tissue, must be distinguished from follicular thyroid carcinoma. While follicular cancer has a good prognosis, it is less favorable than that of papillary carcinoma. The 10-year survival is better for patients with follicular carcinoma without vascular invasion than it is for patients with vascular invasion.

Papillary carcinomas metastasize more frequently to regional lymph nodes than to distant sites. Follicular carcinomas more commonly invade blood vessels and metastasize hematogenously to the lungs and to the bone rather than through the lymphatic system. When metastases occur, treatment with radioiodine is initially effective, but prognosis worsens as resistance to radioiodine ensues.

Staging and prognosis of papillary and follicular thyroid cancer are determined by the patient's age and site of the disease. Patients with papillary thyroid cancer have the following clinical features and prognoses:

- Stage I papillary or follicular thyroid cancer is localized to the thyroid gland in patients aged 55 years or older. In those younger than 55 years, the cancer may have spread to nearby tissues and lymph nodes but not to other parts of the body. In as many as 50% of the cases, papillary thyroid cancer is multifocal.
- Stage II papillary or follicular thyroid cancer is defined by either of the following descriptions: (1) patients are younger than 55 years and the tumor has spread from the thyroid to distant parts of the body, or (2) patients are aged 55 years or older: and the tumor is confined to or has limited invasion outside of the thyroid, with or without lymph node involvement, but without spread to distant parts of the body. Stage II is the most advanced stage possible in a patient younger than 55 years.
- Stage III papillary or follicular thyroid cancer is only possible in patients aged 55 years or older. The thyroid tumor demonstrates extension into surrounding soft tissues, larynx, trachea, esophagus, or recurrent laryngeal nerve. There may or may not be lymph node involvement, but there is no distant spread to other parts of the body.
- Stage IVA papillary or follicular thyroid cancer is only applicable for patients aged 55 years or older. The thyroid tumor demonstrates extension into surrounding soft tissues that includes either prevertebral fascia or encases the carotid artery or mediastinal vessels. There may or may not be lymph node involvement, but there is no distant spread to other parts of the body.
- Stage IVB papillary or follicular thyroid cancer is only applicable for patients aged 55 years or older. It is defined by the presence of distant spread to other parts of the body. The lungs and bones are the most frequent sites of distant spread.

Hürthle cell carcinoma is a variant of follicular carcinoma with a similar prognosis and is treated in the same way as equivalent stage non-Hürthle cell follicular carcinoma.[1]

### Stage Information for Papillary and Follicular Thyroid Cancer

Table 2. Definitions of Differentiated TNM Stage I for Papillary and Follicular Thyroid Carcinoma^a^

Stage | T^b^NM | Description | Illustration
Age at diagnosis is <55 years:
I | Any T, Any N, M0 | TX = Primary tumor cannot be assessed. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | T0 = No evidence of primary tumor. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | T1 = Tumor ≤2 cm in greatest dimension, limited to the thyroid. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –T1a = Tumor ≤1 cm in greatest dimension, limited to the thyroid. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension, limited to the thyroid. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension, limited to the thyroid. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | T3 = Tumor >4 cm limited to the thyroid, or gross extrathyroidal extension invading only strap muscles. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –T3a = Tumor >4 cm limited to the thyroid. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –T3b = Gross extrathyroidal extension invading only strap muscles (sternohyoid, sternothyroid, thyrohyoid, or omohyoid muscles) from a tumor of any size. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | T4 = Includes gross extrathyroidal extension beyond the strap muscles. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –T4a = Gross extrathyroidal extension invading subcutaneous soft tissues, larynx, trachea, esophagus, or recurrent laryngeal nerve from a tumor of any size. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –T4b = Gross extrathyroidal extension invading prevertebral fascia or encasing the carotid artery or mediastinal vessels from a tumor of any size. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | NX = Regional lymph nodes cannot be assessed. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | N0 = No evidence of locoregional lymph node metastasis. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –N0a = One or more cytologically or histologically confirmed benign lymph nodes. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –N0b = No radiological or clinical evidence of locoregional lymph node metastasis. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | N1 = Metastasis to regional nodes. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –N1a = Metastasis to level VI or VII (pretracheal, paratracheal, or prelaryngeal/Delphian, or upper mediastinal) lymph nodes. This can be unilateral or bilateral disease. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | –N1b = Metastasis to unilateral, bilateral, or contralateral cervical neck lymph nodes (levels I, II, III, IV, or V) or retropharyngeal lymph nodes. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
I | Any T, Any N, M0 | M0 = No distant metastasis. | Stage I papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows cancer in the thyroid gland. Also shown are the larynx and trachea.
Age at diagnosis is ≥55 years:
I | T1, N0/NX, M0 | T1 = Tumor ≤2 cm in greatest dimension, limited to the thyroid. | Stage I papillary and follicular thyroid cancer in patients 55 years and older; drawing shows cancer in the thyroid gland and the tumor is 4 centimeters or smaller. An inset shows 4 centimeters is about the size of a walnut. Also shown are the larynx and trachea.
I | T1, N0/NX, M0 | N0 = No evidence of locoregional lymph node metastasis.
I | T1, N0/NX, M0 | NX = Regional lymph nodes cannot be assessed.
I | T1, N0/NX, M0 | M0 = No distant metastasis.
I | T2, N0/NX, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension, limited to the thyroid.
I | T2, N0/NX, M0 | N0 = No evidence of locoregional lymph node metastasis.
I | T2, N0/NX, M0 | NX = Regional lymph nodes cannot be assessed.
I | T2, N0/NX, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Thyroid--Differentiated and Anaplastic Carcinoma. In: Amin, MB, Edge Sb, Greene FL et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 873–90.

^b^All categories may be subdivided: (s) solitary tumor and (m) multifocal tumor (the largest determines the classification).

Table 3. Definitions of Differentiated TNM Stage II for Papillary and Follicular Thyroid Carcinoma^a^

Stage | T^b^NM | Description | Illustration
Age at diagnosis is <55 years:
II | Any T, Any N, M1 | Any T = See descriptions in Table 2. | Stage II papillary and follicular thyroid cancer in patients younger than 55 years; drawing shows other parts of the body where thyroid cancer may spread, including the lung and bone. An inset shows cancer cells spreading from the thyroid gland, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
II | Any T, Any N, M1 | Any N = See descriptions in Table 2.
Age at diagnosis is ≥55 years:
II | T1, N1, M0 | T1 = Tumor ≤2 cm in greatest dimension, limited to the thyroid. | Stage II papillary and follicular thyroid cancer (1) in patients 55 years and older; drawing shows cancer in the thyroid gland and nearby lymph nodes. The tumor is 4 centimeters or smaller. An inset shows 4 centimeters is about the size of a walnut. Also shown are the larynx and trachea.; Stage II papillary and follicular thyroid cancer (2) in patients 55 years and older; drawing shows cancer in the thyroid gland and the tumor is larger than 4 centimeters. An inset shows 4 centimeters is about the size of a walnut. Also shown are the lymph nodes, larynx, and trachea.; Stage II papillary and follicular thyroid cancer (3) in patients 55 years and older; drawing shows cancer in the thyroid gland and nearby muscles in the neck. Also shown are the larynx and trachea.
II | T1, N1, M0 | –T1a = Tumor ≤1 cm in greatest dimension, limited to the thyroid.
II | T1, N1, M0 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension, limited to the thyroid.
II | T1, N1, M0 | N1 = Metastasis to regional nodes.
II | T1, N1, M0 | –N1a = Metastasis to level VI or VII (pretracheal, paratracheal, or prelaryngeal/Delphian, or upper mediastinal) lymph nodes. This can be unilateral or bilateral disease.
II | T1, N1, M0 | –N1b = Metastasis to unilateral, bilateral, or contralateral cervical neck lymph nodes (levels I, II, III, IV, or V) or retropharyngeal lymph nodes.
II | T1, N1, M0 | M0 = No distant metastasis.
II | T2, N1, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension, limited to the thyroid.
II | T2, N1, M0 | N1 = Metastasis to regional nodes.
II | T2, N1, M0 | –N1a = Metastasis to level VI or VII (pretracheal, paratracheal, or prelaryngeal/Delphian, or upper mediastinal) lymph nodes. This can be unilateral or bilateral disease.
II | T2, N1, M0 | –N1b = Metastasis to unilateral, bilateral, or contralateral cervical neck lymph nodes (levels I, II, III, IV, or V) or retropharyngeal lymph nodes.
II | T2, N1, M0 | M0 = No distant metastasis.
II | T3a/T3b, Any N, M0 | –T3a = Tumor >4 cm limited to the thyroid.
II | T3a/T3b, Any N, M0 | –T3b = Gross extrathyroidal extension invading only strap muscles (sternohyoid, sternothyroid, thyrohyoid, or omohyoid muscles) from a tumor of any size.
II | T3a/T3b, Any N, M0 | Any N = See descriptions in Table 2.
II | T3a/T3b, Any N, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Thyroid--Differentiated and Anaplastic Carcinoma. In: Amin, MB, Edge Sb, Greene FL et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 873–90.

^b^All categories may be subdivided: (s) solitary tumor and (m) multifocal tumor (the largest determines the classification).

Table 4. Definitions of Differentiated TNM Stage III for Papillary and Follicular Thyroid Carcinoma^a^

Stage | T^b^NM | Description | Illustration
Age at diagnosis is ≥55 years:
III | T4a, Any N, M0 | –T4a = Gross extrathyroidal extension invading subcutaneous soft tissues, larynx, trachea, esophagus, or recurrent laryngeal nerve from a tumor of any size. | Stage III papillary and follicular thyroid cancer in patients 55 years and older; drawing shows cancer that has spread from the thyroid gland to the esophagus, the trachea, the larynx, and the left recurrent laryngeal nerve. Also shown is the right recurrent laryngeal nerve.
III | T4a, Any N, M0 | Any N = See descriptions in Table 2.
III | T4a, Any N, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Thyroid--Differentiated and Anaplastic Carcinoma. In: Amin, MB, Edge Sb, Greene FL et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 873–90.

^b^All categories may be subdivided: (s) solitary tumor and (m) multifocal tumor (the largest determines the classification).

Table 5. Definitions of Differentiated TNM Stages IVA and IVB for Papillary and Follicular Thyroid Carcinoma^a^

Stage | T^b^NM | Description | Illustration
Age at diagnosis is ≥55 years:
IVA | T4b, Any N, M0 | –T4b = Gross extrathyroidal extension invading prevertebral fascia or encasing the carotid artery or mediastinal vessels from a tumor of any size. | Stage IVA papillary and follicular thyroid cancer in patients 55 years and older; drawing shows cancer has (a) spread to tissue in front of the spine, (b) surrounded the common carotid artery, and (c) surrounded the blood vessels in the area between the lungs. Also shown are the thyroid gland, trachea, and lymph nodes.
IVA | T4b, Any N, M0 | Any N = See descriptions in Table 2.
IVA | T4b, Any N, M0 | M0 = No distant metastasis.
IVB | Any T, Any N, M1 | Any T = See descriptions in Table 2. | Stage IVB papillary and follicular thyroid cancer in patients 55 years and older; drawing shows other parts of the body where thyroid cancer may spread, including the lung and bone. An inset shows cancer cells spreading from the thyroid, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
IVB | Any T, Any N, M1 | Any N = See descriptions in Table 2.
IVB | Any T, Any N, M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Thyroid--Differentiated and Anaplastic Carcinoma. In: Amin, MB, Edge Sb, Greene FL et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 873–90.

^b^All categories may be subdivided: (s) solitary tumor and (m) multifocal tumor (the largest determines the classification).

Table 6. Definitions of Anaplastic TNM Stages IVA, IVB, and IVC for Papillary and Follicular Thyroid Carcinoma^a^

Stage | T^b^NM | Description | Illustration
IVA | T1–T3a, N0/NX, M0 | T1 = Tumor ≤2 cm in greatest dimension, limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | –T1a = Tumor ≤1 cm in greatest dimension, limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension, limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension, limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | T3 = Tumor >4 cm limited to the thyroid, or gross extrathyroidal extension invading only strap muscles. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | –T3a = Tumor >4 cm limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | N0 = No evidence of locoregional lymph node metastasis. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | –N0a = One or more cytologically or histologically confirmed benign lymph nodes. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | –N0b = No radiological or clinical evidence of locoregional lymph node metastasis. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | NX = Regional lymph nodes cannot be assessed. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | M0 = No distant metastasis | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVB | T1–T3a, N1, M0 | T1 = Tumor ≤2 cm in greatest dimension, limited to the thyroid. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.; Stage IVB anaplastic thyroid cancer (2); drawing shows cancer in the thyroid gland and nearby muscles in the neck. The lymph nodes are also shown.; Stage IVB anaplastic thyroid cancer (3); drawing shows cancer in the thyroid gland and in the esophagus, the trachea, the larynx, the left recurrent laryngeal nerve, and the tissue in front of the spine (inset). Cancer has also surrounded the common carotid artery and the blood vessels in the area between the lungs. Also shown is the right recurrent laryngeal nerve.
IVB | T1–T3a, N1, M0 | –T1a = Tumor ≤1 cm in greatest dimension, limited to the thyroid.
IVB | T1–T3a, N1, M0 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension, limited to the thyroid.
IVB | T1–T3a, N1, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension, limited to the thyroid.
IVB | T1–T3a, N1, M0 | T3 = Tumor >4 cm limited to the thyroid, or gross extrathyroidal extension invading only strap muscles.
IVB | T1–T3a, N1, M0 | –T3a = Tumor >4 cm limited to the thyroid.
IVB | T1–T3a, N1, M0 | N1 = Metastasis to regional nodes.
IVB | T1–T3a, N1, M0 | –N1a = Metastasis to level VI or VII (pretracheal, paratracheal, or prelaryngeal/Delphian, or upper mediastinal) lymph nodes. This can be unilateral or bilateral disease.
IVB | T1–T3a, N1, M0 | –N1b = Metastasis to unilateral, bilateral, or contralateral cervical neck lymph nodes (levels I, II, III, IV, or V) or retropharyngeal lymph nodes.
IVB | T1–T3a, N1, M0 | M0 = No distant metastasis.
IVB | T3b, Any N, M0 | –T3b = Gross extrathyroidal extension invading only strap muscles (sternohyoid, sternothyroid, thyrohyoid, or omohyoid muscles) from a tumor of any size.
IVB | T3b, Any N, M0 | Any N = See descriptions in Table 2.
IVB | T3b, Any N, M0 | M0 = No distant metastasis.
IVB | T4, Any N, M0 | T4 = Includes gross extrathyroidal extension beyond the strap muscles.
IVB | T4, Any N, M0 | –T4a = Gross extrathyroidal extension invading subcutaneous soft tissues, larynx, trachea, esophagus, or recurrent laryngeal nerve from a tumor of any size.
IVB | T4, Any N, M0 | –T4b = Gross extrathyroidal extension invading prevertebral fascia or encasing the carotid artery or mediastinal vessels from a tumor of any size.
IVB | T4, Any N, M0 | Any N = See descriptions in Table 2.
IVB | T4, Any N, M0 | M0 = No distant metastasis.
IVC | Any T, Any N, M1, | Any T = See descriptions in Table 2. | Stage IVC anaplastic thyroid cancer; drawing shows other parts of the body where thyroid cancer may spread, including the lung and bone. An inset shows cancer cells spreading from the thyroid, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
IVC | Any T, Any N, M1, | Any N = See descriptions in Table 2.
IVC | Any T, Any N, M1, | M1 = Distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Thyroid--Differentiated and Anaplastic Carcinoma. In: Amin, MB, Edge Sb, Greene FL et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 873–90.

^b^All categories may be subdivided: (s) solitary tumor and (m) multifocal tumor (the largest determines the classification).

### Treatment Options for Papillary and Follicular Thyroid Cancer

#### Localized/regional papillary and follicular thyroid cancer

Surgery is the therapy of choice for all primary lesions. Surgical options include total thyroidectomy or lobectomy. The choice of procedure is influenced mainly by the age of the patient and the size of the nodule. For patients with early-stage disease, survival rates are similar when comparing the two procedures; however, the rates of surgical complications and local recurrences are different.[2-8]

##### Treatment options for localized/regional papillary and follicular thyroid cancer

Treatment options for localized/regional papillary and follicular thyroid cancer include:

1. Surgery.
  - Total thyroidectomy.
  - Lobectomy.
2. Radioactive iodine (RAI) therapy.
3. Thyroid-suppression therapy.
4. External-beam radiation therapy (EBRT).

###### Surgery

The objective of surgery is to completely remove the primary tumor, while minimizing treatment-related morbidity, and to guide postoperative treatment with RAI. The goal of RAI is to ablate the remnant thyroid tissue to improve the specificity of thyroglobulin assays, which allows the detection of persistent disease by follow-up whole-body scanning. For patients undergoing RAI, removal of all normal thyroid tissue is an important surgical objective. Additionally, for accurate long-term surveillance, RAI whole-body scanning and measurement of serum thyroglobulin are affected by residual, normal thyroid tissue. In these situations, near total or total thyroidectomy is required. This approach facilitates follow-up thyroid scanning.

###### Total thyroidectomy

Total thyroidectomy is often used because of the high incidence of multicentric involvement of both lobes of the gland and the possibility of dedifferentiation of any residual tumor to the anaplastic cell type.

Evidence (total thyroidectomy):

1. An analysis of the National Cancer Data Base (NCDB) registry identified 52,173 patients who underwent surgery for papillary thyroid cancer. Of these individuals, 43,227 (82.9%) underwent total thyroidectomy, and 8,946 (17.1%) underwent lobectomy.[9][Level of evidence C1]
  - For a papillary thyroid cancer tumor that measured less than 1 cm, the extent of surgery did not impact recurrence (P = .24) or survival (P = .83).
  - For tumors that measured 1 cm or larger, lobectomy resulted in higher risk of recurrence (P = .04) and death (P = .009).
  - To minimize the influence of larger tumors, 1-cm to 2-cm lesions were examined separately. Lobectomy resulted in a higher risk of recurrence (P = .04) and death (P = .04).
  - For patients with papillary thyroid cancer tumors that measured 1 cm or larger, total thyroidectomy resulted in lower recurrence rates and improved survival compared with lobectomy.
2. In a pattern-of-care study that used the NCDB registry from 1985 to 2003, 57,243 patients with papillary thyroid cancer whose tumors measured 1 cm or larger underwent total thyroidectomy or lobectomy. Trends in the extent of surgery were examined for patients with papillary thyroid cancer over two decades. Logistic regression was used to identify factors that predicted the use of total thyroidectomy compared with lobectomy.[10][Level of evidence C1]
  - Use of total thyroidectomy increased from 70.8% in 1985 to 90.4% in 2003 (P < .0001).
  - Patients treated at high-volume medical facilities or academic centers were more likely to undergo total thyroidectomy than were patients examined at low-volume medical facilities or community hospitals (P < .0001).

###### Lobectomy

Thyroid lobectomy alone may be sufficient treatment for small (<1 cm), low-risk, unifocal, intrathyroidal papillary carcinomas in the absence of previous head and neck irradiation or radiologically or clinically involved cervical nodal metastases. This procedure is associated with a lower incidence of complications, but approximately 5% to 10% of patients will have a recurrence in the thyroid after a lobectomy.[11]

Abnormal regional lymph nodes are biopsied at the time of surgery. Recognized involved nodes are removed at initial surgery, but selective node removal can be performed, and radical neck dissection is usually not required. This results in a decreased recurrence rate but has not been shown to improve survival. Follicular thyroid cancer commonly metastasizes to lungs and bone. When a remnant lobe remains, use of iodine I 131 as ablative therapy is compromised because the radioiodine will be preferentially taken up by the remnant normal tissue rather than by the tumor.

###### Radioactive iodine (RAI) therapy

Studies have shown that a postoperative course of therapeutic (ablative) doses of radioiodine 131I results in a decreased recurrence rate among high-risk patients with papillary and follicular carcinomas.[5] RAI may be given in addition to exogenous thyroid hormone but is not considered routine.[12] RAI treatment is optimal after total thyroidectomy with minimal thyroid remnant. With a large thyroid remnant, a low thyroglobulin level cannot be achieved, which increases the chance of requiring multiple doses of RAI.

Consideration of RAI for remnant ablation is based on the following pathological risk features:

- The size of the primary tumor.
- The presence of lymphovascular invasion.
- Capsule invasion.
- The number of involved lymph nodes.

RAI may be given with one of two methods of thyroid-stimulating hormone (TSH/thyrotropin) stimulation:

- Withdrawal of thyroid hormone.
- Administration of recombinant human thyrotropin (rhTSH).

Administered rhTSH maintains quality of life and reduces the radiation dose delivered to the body compared with thyroid hormone withdrawal.[13] Patients presenting with papillary thyroid microcarcinomas (tumors <10 mm), which are considered to be very low risk, have an excellent prognosis when treated surgically. Additional therapy with 131I would not be expected to improve the prognosis.[14]

The role of RAI in low-risk patients is not clear because disease-free survival (DFS) or overall survival (OS) benefits have not been demonstrated.

Evidence (surgery with or without RAI):

1. One study reviewed 1,298 patients with low-risk disease from the French Thyroid Cancer Registry.[15] Patients were identified as having low-risk papillary or follicular cancer as defined by the following American Thyroid Association and European Thyroid Association criteria:
  - Complete tumor resection.
  - Multifocal tumors 1 cm or smaller confined to the thyroid.
  - Tumors larger than 1 cm but no larger than 4 cm confined to the thyroid.
  - No lymph node involvement or distant metastatic disease.

Of the 1,298 patients, 911 patients received RAI after surgery, and 387 patients did not receive RAI after surgery. The follow-up period was 10.3 years.

- In multivariate analyses, there were no differences in OS (P = .243) or DFS (P = .2659), according to RAI use.[15]

Long-term complications of RAI with 131I include:

- Second malignancies.
- Sialadenitis.
- Lacrimal and salivary gland dysfunction.

Options for decreasing radiation exposure in patients with low-risk thyroid cancer have been explored. These options have included reducing the amount of RAI in each dose and giving RAI in combination with rhTSH injections.

Evidence (thyroid hormone withdrawal or use of rhTSH with 131I):

1. A phase III, randomized, noninferiority study included patients with low-risk thyroid cancer. The study compared two thyrotropin-stimulation methods (thyroid hormone withdrawal or use of rhTSH) and two 131I doses (1.1 GBq [30 mCi] and 3.7 GBq [100 mCi]), using a 2 × 2 factorial design.[16][Level of evidence C1]
  - Thyroid ablation rates were equivalent between high- and low-dose 131I at 6 to 10 months after administration of 131I.
  - Patients with more advanced T stage (T1–T3, N0–1) and with less than a total thyroidectomy were included with a lower overall ablation rate of 85%.
2. Another phase III, randomized, noninferiority study of patients with low-risk thyroid cancer compared two thyrotropin-stimulation methods (thyroid hormone withdrawal or use of rhTSH) and two 131I doses (1.1 GBq [30 mCi] and 3.7 GBq [100 mCi]), using a 2 × 2 factorial design. The inclusion criteria consisted of a low-risk, homogeneous cohort. All of the patients underwent total thyroidectomy and had pathological TNM stage pT1 (≤1 cm) and N1 or NX, pT1 (>1–2 cm) and any N, or pT2, N0 without thyroid capsule extension/distant metastases.[17][Level of evidence C1]
  - Thyroid ablation rates were equivalent between high- and low-dose 131I at 6 to 10 months after administration of 131I.
  - Complete thyroid ablation rate was 92%.
  - Patients who underwent thyroid hormone withdrawal had more symptoms of hypothyroidism associated with deterioration in quality of life than the patients who received rhTSH.

Neither study assessed the effect of low-dose RAI on long-term recurrences or survival. The studies also did not address whether RAI could be safely omitted in specific low-risk groups.

###### Thyroid-suppression therapy

After thyroid surgery, all patients, except those undergoing lobectomies, require thyroid hormone replacement therapy. For patients who have undergone thyroidectomy, supratherapeutic doses of thyroid hormone are routinely given to suppress TSH levels. The degree of TSH suppression recommended depends on the risk of recurrence and the comorbidities of the patient. Studies have suggested that TSH suppression improves progression-free survival (PFS), but there is no definitive evidence that it improves OS.[18,19]

###### External-beam radiation therapy (EBRT)

EBRT is typically reserved for palliative treatment of unresectable or metastatic papillary or follicular thyroid cancer. In some cases, it may be appropriate to give EBRT in the adjuvant setting if there is confirmed or suspected microscopic residual disease that is confirmed or suspected to be refractory to RAI. There are no randomized trials to guide the selection of patients who might benefit from treatment with EBRT. The decision to use EBRT is based on retrospective data and clinical judgment.[20]

#### Metastatic papillary and follicular thyroid cancer

Total thyroidectomy is still recommended as the initial treatment for metastatic papillary or follicular thyroid cancer. RAI is the second treatment and is given to ablate the remnant thyroid and treat the metastatic disease. If a thyroidectomy is not done, then RAI is not a treatment option for the patient. The most common sites of distant metastases are the lungs and bones. Treatment of distant metastases is usually not curative but may produce significant palliation. Genomic testing to identify actionable variants like RET and NTRK gene fusions should be considered for patients with advanced progressive disease. Treatment options for iodine-sensitive and iodine-resistant metastatic papillary and follicular thyroid cancer are described below.

Treatment options for iodine-sensitive thyroid cancer

Treatment options for iodine-sensitive thyroid cancer include:

1. RAI therapy. Metastases that demonstrate uptake of this isotope may be ablated by therapeutic doses of 131I.
2. Thyroid-suppression therapy.

Treatment options for iodine-resistant thyroid cancer

Treatment options for iodine-resistant thyroid cancer include:

1. Thyroid-suppression therapy.
2. Targeted therapy.
  - Tyrosine kinase inhibitors.
3. Surgery.
4. EBRT.
5. Chemotherapy (under clinical evaluation).
6. Clinical trials.

##### Thyroid-suppression therapy

TSH suppression with thyroxine is effective in many lesions that are not sensitive to 131I.

##### Targeted therapy

###### Tyrosine kinase inhibitors

###### Sorafenib

Sorafenib is an orally active multitargeted tyrosine kinase inhibitor.

Evidence (sorafenib):

1. A phase III, randomized, double-blind, placebo-controlled study (DECISION (https://www.cancer.gov/clinicaltrials/NCT00984282) [NCT00984282]) evaluated the activity of sorafenib in patients with progressive, iodine-refractory, differentiated thyroid cancer.[21] The trial included 417 patients with locally advanced or metastatic RAI−refractory thyroid cancer (papillary, follicular [including Hürthle cell], and poorly differentiated, not anaplastic tumors, defined as beyond well-differentiated tumors or those well-differentiated tumors that become resistant to radioiodine treatment) whose disease had progressed within the past 14 months. Patients were randomly assigned to receive either sorafenib (400 mg twice a day) or placebo. Patients who received previous chemotherapy, thalidomide, or targeted therapy were excluded.[21][Level of evidence B1]
  - The median PFS was 10.8 months in the sorafenib group and 5.8 months in the placebo group (hazard ratio [HR] 0.59; 95% confidence interval [CI], 0.45–0.76; P < .0001).
  - OS was not significantly improved (HR, 0.80; 95% CI, 0.54–1.19; one-sided P = .14), but the median OS had not been reached at the time of primary analysis data cutoff, and crossover was allowed.
  - The objective response rate (all partial responses) was 12.2% in the sorafenib group and 0.5% in the placebo group.
  - Median time-to-progression was 11.1 months in the sorafenib group and 5.7 months in the placebo group (HR, 0.56; 95% CI, 0.43–0.72; P < .001).
  - Adverse events occurred in 98.6% of patients treated with sorafenib and 87.6% of patients treated with placebo. The most common adverse events in the sorafenib group were hand-foot skin reactions (76.3%), diarrhea (68.6%), alopecia (67.1%), and rash or desquamation (50.2%). Most events were grade 1 or 2. Seven squamous cell carcinomas of the skin occurred in the sorafenib group.

###### Lenvatinib

Lenvatinib is an orally active, multitargeted tyrosine kinase inhibitor.

Evidence (lenvatinib):

1. A phase III, randomized, double-blind, placebo-controlled study (SELECT (https://www.cancer.gov/clinicaltrials/NCT01321554) [NCT01321554]) evaluated the activity of lenvatinib in patients with progressive, iodine-refractory, differentiated thyroid cancer.[22] In this trial, 261 patients were randomly assigned to receive lenvatinib (24 mg every day), and 131 patients were randomly assigned to receive placebo. Eligible patients had differentiated thyroid cancer (including papillary, follicular, poorly differentiated, and Hürthle cell carcinomas), RAI-refractory disease, and evidence of radiological progression within the previous 13 months. At disease progression, patients in the placebo group could receive open-label lenvatinib. The primary end point was PFS, while the secondary end points were OS, response rate, and safety.[22][Level of evidence B1]
  a. The median PFS was 18.3 months in the lenvatinib group and 3.6 months in the placebo group (HR_progression or death_, 0.21; 99% CI, 0.14–0.31; P < .001). A PFS difference was observed in patients with all histological types of thyroid cancer enrolled in this trial.
  b. There was no significant difference in OS between the two groups (HR _death_, 0.73; 95% CI, 0.50–1.07; P = .10), even with the crossover design of the study.
  c. The objective response rate was 64.8% in the lenvatinib group versus 1.5% in the placebo group (odds ratio [OR], 28.87; 95% CI, 12.46–66.86; P < .001).
  d. Treatment-related adverse events (all grades) occurred in 97.3% of patients in the lenvatinib group and 59.5% of patients in the placebo group.
    - Grade 3 or higher adverse events were observed in 75.9% of patients who received lenvatinib and 9.9% of patients who received placebo.
    - The most common adverse events in the lenvatinib group were hypertension (67.8%), diarrhea (59.4%), fatigue (59%), decreased appetite (50.2%), decreased weight (46.4%), and nausea (41%).
    - Adverse events led to discontinuation of the study drug in 14.2% of patients who received lenvatinib and 2.3% of patients who received placebo.
    - In the lenvatinib group, 6 of 20 deaths occurring during the treatment period were considered drug related.

##### Surgery

Resection of limited metastases, especially symptomatic metastases, should be considered when the tumor has no uptake of 131I.

##### EBRT

EBRT is considered for patients with localized lesions that are unresponsive to 131I.[23]

##### Chemotherapy (under clinical evaluation)

Chemotherapy has produced occasional complete responses of long duration.[24-26]

##### Clinical trials

Patients with radioiodine-refractory papillary or follicular thyroid cancer can consider participating in clinical trials that evaluate new treatment approaches. Oral inhibitors targeting specific single nucleotide variants are under clinical evaluation, as are new immunotherapy approaches.[27-29][Level of evidence B4]

#### Recurrent papillary and follicular thyroid cancer

Approximately 10% to 30% of patients thought to be disease free after initial treatment develop recurrence and/or metastases. Of these patients, approximately 80% develop recurrence with disease in the neck alone, and 20% develop recurrence with distant metastases. The lungs are the most common site of distant metastasis. In a single series of 289 patients who developed recurrences after initial surgery, 16% died of cancer at a median time of 5 years after recurrence.[5]

The prognosis for patients with clinically detectable recurrences is generally poor, regardless of cell type.[30] Patients with local or regional tumor recurrence detected only by 131I scan have a better prognosis.[31]

The selection of further treatment depends on many factors, including:

- Cell type.
- Uptake of 131I.
- Previous treatment.
- Site of recurrence.
- Individual patient considerations.
- Presence of an activating RET or NTRK gene fusion.

Patients treated for differentiated thyroid cancer are monitored carefully with physical examinations, serum quantitative thyroglobulin levels, and radiological studies based on individual risk for recurrent disease.[32]

Treatment options for recurrent papillary and follicular thyroid cancer

Treatment options for recurrent papillary and follicular thyroid cancer include:

1. Surgery with or without postoperative RAI.
2. Targeted therapy.
  - Tyrosine kinase inhibitors.
  - RET kinase inhibitors.
  - NTRK inhibitors.
3. EBRT.
4. Chemotherapy.
5. Clinical trials.

##### Surgery with or without postoperative RAI therapy

Surgery with or without 131I ablation can be useful in controlling local recurrences, regional node metastases, or occasionally, metastases at other localized sites.[33] Approximately 50% of the patients who undergo surgery for recurrent tumors can be rendered free of disease with a second operation.[30] Local and regional recurrences detected by 131I scan and not clinically apparent can be treated with 131I ablation and have an excellent prognosis.[34]

Up to 25% of recurrences and metastases from well-differentiated thyroid cancer may not show 131I uptake. For these patients, other standard imaging techniques such as ultrasonography, computed tomography, magnetic resonance imaging, and positron emission tomography scans may detect recurrent or metastatic disease.

Patients unresponsive to 131I should consider enrolling in clinical trials testing new approaches to treating this disease.

##### Targeted therapy

###### Tyrosine kinase inhibitors

###### Sorafenib

Sorafenib is an orally active, multitargeted tyrosine kinase inhibitor. The U.S. Food and Drug Administration (FDA) approved sorafenib as a treatment option when recurrent disease does not concentrate 131I or disease recurs after 131I ablation.

Evidence (sorafenib):

1. A phase III, randomized, double-blind, placebo-controlled study (DECISION (https://www.cancer.gov/clinicaltrials/NCT00984282) [NCT00984282]) evaluated sorafenib in patients with progressive, iodine-refractory, differentiated thyroid cancer.[21] This trial included 417 patients with locally advanced or metastatic RAI-refractory thyroid cancer (papillary, follicular [including Hürthle cell], and poorly differentiated tumors) whose disease had progressed within the past 14 months. Patients were randomly assigned to receive either sorafenib (400 mg twice a day) or placebo. Patients who received previous chemotherapy, thalidomide, or targeted therapy were excluded.[21][Level of evidence B1]
  - The median PFS was 10.8 months in the sorafenib group and 5.8 months in the placebo group (HR, 0.59; 95% CI, 0.45–0.76; P < .001).
  - OS was not significantly improved (HR, 0.80; 95% CI, 0.54–1.19; one-sided P = .14), but the median OS had not been reached at the time of primary analysis data cutoff, and crossover was allowed.
  - Objective response rates (all partial responses) were 12.2% in the sorafenib group and 0.5% in the placebo group.
  - Median time-to-progression was 11.1 months in the sorafenib group and 5.7 months in the placebo group (HR, 0.56; 95% CI, 0.43–0.72; P < .001).
  - Adverse events occurred in 98.6% of patients treated with sorafenib and 87.6% of patients treated with placebo. The most common adverse events in the sorafenib group were hand-foot skin reactions (76.3%), diarrhea (68.6%), alopecia (67.1%), and rash or desquamation (50.2%). Most events were grade 1 or 2. Seven squamous cell carcinomas of the skin occurred in the sorafenib group.

###### Lenvatinib

Lenvatinib is an orally active, multitargeted tyrosine kinase inhibitor.

Evidence (lenvatinib):

1. A phase III, randomized, double-blind, placebo-controlled study (SELECT (https://www.cancer.gov/clinicaltrials/NCT01321554) [NCT01321554]) evaluated the activity of lenvatinib in patients with progressive, iodine-refractory, differentiated thyroid cancer.[22] In this trial, 261 patients were randomly assigned to receive lenvatinib (24 mg every day), and 131 patients were randomly assigned to receive placebo. Eligible patients had differentiated thyroid cancer (including papillary, follicular, poorly differentiated, and Hürthle cell carcinomas), RAI-refractory disease, and evidence of radiological progression within the previous 13 months. At disease progression, patients in the placebo group could receive open-label lenvatinib. The primary end point was PFS, while the secondary end points were OS, response rate, and safety.[22][Level of evidence B1]
  a. The median PFS in the lenvatinib group was 18.3 months versus 3.6 months in the placebo group (HR_progression or death_, 0.21; 99% CI, 0.14–0.31; P < .001). A PFS difference was observed in patients with all histological types of thyroid cancer enrolled in this trial.
  b. There was no significant difference in OS between the two groups (HR_death_, 0.73; 95% CI, 0.50–1.07; P = .10), even with the crossover design of the study.
  c. The objective response rate was 64.8% in the lenvatinib group and 1.5% in the placebo group (OR, 28.87; 95% CI, 12.46–66.86; P < .001).
  d. Treatment-related adverse events (all grades) occurred in 97.3% of patients in the lenvatinib group and 59.5% of patients in the placebo group.
    - Grade 3 or higher adverse events were observed in 75.9% of patients who received lenvatinib and 9.9% of patients who received placebo.
    - The most frequent adverse events in the lenvatinib group were hypertension (67.8%), diarrhea (59.4%), fatigue (59%), decreased appetite (50.2%), decreased weight (46.4%), and nausea (41%).
    - Adverse events led to discontinuation of the study drug in 14.2% of patients who received lenvatinib and 2.3% of patients who received placebo.
    - In the lenvatinib group, 6 of 20 deaths occurring during the treatment period were considered drug related.

###### Cabozantinib

Cabozantinib is an orally bioavailable tyrosine kinase inhibitor of c-MET and vascular endothelial growth factor receptor-2 (VEGFR-2).

Evidence (cabozantinib):

1. A phase III, randomized, double blind, placebo-controlled study (COSMIC-311 (https://www.cancer.gov/clinicaltrials/NCT03690388) [NCT03690388]) was conducted to evaluate the efficacy of cabozantinib in patients aged 16 years and older with RAI-refractory differentiated thyroid cancer. Objective response rate was the primary end point in the first 100 randomly assigned patients (the objective response rate intention-to-treat [OITT] population), and PFS was the primary end point in all randomly assigned patients (the intention-to-treat [ITT] population).[35]
  - Of 187 patients, 63% had received previous therapy with lenvatinib, 60% had received previous therapy with sorafenib, and 24% had received previous therapy with both lenvatinib and sorafenib. Most patients (76%) had experienced disease progression while receiving sorafenib or lenvatinib.
  - In the OITT population, 15% of patients (99% CI, 5.8%–29.3%) in the cabozantinib group had a confirmed partial response, and median duration of response had not been reached at the data cutoff.
  - In the ITT population, after a median follow-up of 6.2 months, patients who received cabozantinib showed significant improvement in PFS compared with patients who received placebo (median not reached [96% CI, 5.7–not estimable (NE)] vs. 1.9 months [1.8–3.6]) (HR, 0.22; 96% CI, 0.13–0.36; P < .0001). Median OS was not reached in either ITT group (95% CI, NE–NE) (HR, 0.54; 95% CI, 0.27–1.11). The 6-month OS rate was 85% (95% CI, 75%–91%) in the cabozantinib group and 73% (58.4%–83.7%) in the placebo group.
  - Grade 3 to 4 treatment-related adverse events occurred in 57% of patients who received cabozantinib and 26% of patients who received placebo, and included palmar-plantar erythrodysesthesia (10%), hypertension (11%), fatigue (8%), diarrhea (7%), and hypocalcemia (7%). Serious treatment-related adverse events occurred in 20 of 125 patients (16%) in the cabozantinib group and 1 of 62 patients (2%) in the placebo group. There were no treatment-related deaths.
  - In 2021, the FDA reviewed a new drug application for the use of cabozantinib in patients aged 12 years and older with differentiated thyroid cancer because there are no standard-of-care treatments for this population after anti-VEGFR therapy, such as lenvatinib or sorafenib.

###### RET kinase inhibitors

###### Selpercatinib

Selpercatinib is an orally active, highly selective, small-molecule RET kinase inhibitor.

Evidence (selpercatinib):

1. A phase I/II trial (LIBRETTO-001 (https://www.cancer.gov/clinicaltrials/NCT03157128) [NCT03157128]) evaluated the safety and efficacy of selpercatinib in adolescent and adult patients with any solid tumor with an activating RET pathogenic variant. The primary end point was an objective response (complete response or partial response). Patients with RET fusion–positive thyroid cancer had radioiodine-refractory disease and received at least one previous systemic therapy other than radioiodine. Nineteen patients with RET fusion–positive thyroid cancer were enrolled; 13 patients had papillary thyroid cancer, 3 had poorly differentiated thyroid cancer, 1 had anaplastic thyroid cancer, and 1 had Hürthle cell thyroid cancer. Ninety-five percent of patients with RET fusion–positive thyroid cancer received the phase II dose of 160 mg twice daily.[36]
  a. The objective response rate was 79% (95% CI, 54%−94%).[36][Level of evidence C2]
  b. At 1 year, 71% of responses were ongoing (95% CI, 39%−88%) and 64% of patients were progression-free.
  c. Treatment-related adverse events (any grade) occurred in 94% of patients.
    - Grade 3 adverse events were observed in 28% of patients, and grade 4 adverse events were observed in 2% of patients.
    - The most frequent adverse events were dry mouth (46%), hypertension (43%), diarrhea (38%), fatigue (38%), increased aspartate aminotransferase (AST) level (35%), nausea (35%), and constipation (35%).
    - Thirty percent of patients had dose reductions because of treatment-related adverse events, and 2% of patients discontinued the drug because of adverse events.
2. A phase III randomized trial (NCT04211337 (https://www.cancer.gov/clinicaltrials/NCT04211337)) compared first-line selpercatinib with physician’s choice of cabozantinib or vandetanib (control group). Eligible patients had progressive disease within the 14 months before enrollment. The primary end point in the protocol-specified interim efficacy analysis was PFS, assessed by blinded independent central review. Patients in the control group with disease progression were permitted to cross over to the selpercatinib group. Treatment failure–free survival, assessed by blinded independent central review, was a secondary, alpha-controlled end point that was to be tested only if PFS was significant. Other secondary end points included overall response and safety.[37]
  - At a median follow-up of 12 months, the median PFS was not reached in the selpercatinib group and was 16.8 months in the control group (95% CI, 12.2–25.1) (HR_disease progression or death_, 0.28; 95% CI, 0.16–0.48; P < .001).[37][Level of evidence B1]
  - The 12-month PFS rate was 86.8% (95% CI, 79.8%–91.6%) in the selpercatinib group and 65.7% (95% CI, 51.9%–76.4%) in the control group.
  - The overall response rate was 69.4% (95% CI, 62.4%–75.8%) in the selpercatinib group and 38.8% (95% CI, 29.1%–49.2%) in the control group.
  - Adverse events led to a dose reduction in 38.9% of patients in the selpercatinib group and 77.3% of patients in the control group. Adverse events led to treatment discontinuation in 4.7% of patients in the selpercatinib group and 26.8% of patients in the control group.

###### Pralsetinib

Pralsetinib is an oral RET-targeted therapy. In December 2020, the FDA approved pralsetinib for patients aged 12 years and older and for adults with advanced or metastatic RET-altered medullary thyroid cancer (MTC) or RET fusion–positive RAI-refractory differentiated thyroid cancer.

Evidence (pralsetinib):

1. A phase I/II, multicenter, open-label study (ARROW (https://www.cancer.gov/clinicaltrials/NCT03037385) [NCT03037385]) evaluated the efficacy and safety of pralsetinib.[38]
  - At data cutoff, 147 patients had RET-altered MTC and 22 patients had RET fusion–positive differentiated thyroid cancer. A total of 142 patients with RET-altered MTC or RET fusion–positive differentiated thyroid cancer initiated the phase II dose of pralsetinib at 400 mg once daily.
  - There were 61 patients with RET-altered MTC who had previously received cabozantinib, vandetanib, or both, and 23 patients were treatment-naïve.
  - In patients with RET fusion–positive differentiated thyroid cancer, the overall response rate was 89% (95% CI, 52%–100%), all of which were partial responses. Duration of response was not reached after a median follow-up of 9.5 months. Median PFS was not reached (95% CI, NE), with an estimated 1-year PFS rate of 81% after a median follow-up of 12.9 months. Median OS was also not reached, with an estimated 1-year OS rate of 91% (95% CI, 74%–100%) after a median follow-up of 15.8 months.
  - The most frequent all-cause adverse events were anemia (45%), musculoskeletal pain (45%), constipation (44%), increased AST (42%), and hypertension (40%). Grade 3 to 4 treatment-related adverse events included hypertension (17%), neutropenia (13%), lymphopenia (12%), and anemia (10%). Serious adverse events were reported in 15% of patients; the most frequently reported serious adverse event was pneumonitis (4%).
  - Of note, in patients with RET-altered MTC previously treated with cabozantinib, vandetanib, or both, the overall response rate was 60% (95% CI, 46%–73%). One patient (2%) had a complete response. However, in 2023 pralsetinib was withdrawn from FDA approval for this indication.[39]

###### NTRK inhibitors

###### Larotrectinib

Larotrectinib is a potent and highly selective small-molecule inhibitor of the TRKA, TRKB, and TRKC proteins.

Evidence (larotrectinib):

1. An expanded pooled efficacy analysis included 159 patients with TRK fusion−positive cancers treated with larotrectinib. The safety analysis included 260 patients treated with larotrectinib, regardless of TRK gene fusion status.[40]
  a. For the 24 patients with thyroid cancer, the overall response rate was 79% (95% CI, 58%−93%). The median duration of response was NE (14.8 months−NE).[40][Level of evidence C2]
  b. Of the 260 patients in the safety analysis, 13% had grade 3 treatment-related adverse events and less than 1% had grade 4 treatment-related adverse events.
    - The most common grade 3 or 4 treatment-related adverse events were increased alanine aminotransferase (3%), anemia (2%), and decreased neutrophil count (2%).
    - Doses were reduced in 8% of patients with TRK fusion–positive cancer because of adverse events. The drug was discontinued in 2% of patients because of treatment-related adverse events.

###### Entrectinib

Entrectinib is a potent small-molecule inhibitor of the TRKA, TRKB, TRKC, ROS1, and ALK proteins.

Evidence (entrectinib):

1. A pooled analysis of three phase I/II trials evaluated the efficacy and safety of entrectinib in patients with metastatic or locally advanced or unresectable NTRK fusion−positive solid tumors. The efficacy analysis included 54 adult patients with advanced or metastatic NTRK fusion−positive solid tumors.[41]
  a. The objective response rate was 57% (95% CI, 34.2%−70.8%). Seven percent of patients had a complete response, and 50% of patients had a partial response.[41][Level of evidence C2]
  b. The median duration of response was 10 months (95% CI, 7.1−NE), and the median PFS was 11 months (95% CI, 8−14.9).
  c. For the five patients with thyroid cancer, the overall response rate was 20% (95% CI, 1%−72%).
  d. In the overall safety population (n = 355), the most frequently reported treatment-related adverse events were dysgeusia (41%), fatigue (28%), dizziness (26%), constipation (23%), and diarrhea (22%).
    - The most common grade 3 or 4 treatment-related adverse events were increased weight (5%) and anemia (5%).

##### EBRT

EBRT or intraoperative radiation therapy can be useful in controlling symptoms related to local tumor recurrences.[42]

##### Chemotherapy

Systemic chemotherapy can be considered. Chemotherapy has been reported to produce occasional objective responses, usually of short duration.[26,31]

##### Clinical trials

Patients with recurrent papillary or follicular thyroid cancer should consider enrolling in clinical trials evaluating new treatment approaches to this disease. Oral inhibitors targeting specific single nucleotide variants are under clinical evaluation, as are new immunotherapy approaches.[27-29][Level of evidence B4]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Haigh PI, Urbach DR: The treatment and prognosis of Hürthle cell follicular thyroid carcinoma compared with its non-Hürthle cell counterpart. Surgery 138 (6): 1152-7; discussion 1157-8, 2005.16360403
Carling T, Udelsman R: Thyroid tumors. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 1457-72.
Grant CS, Hay ID, Gough IR, et al.: Local recurrence in papillary thyroid carcinoma: is extent of surgical resection important? Surgery 104 (6): 954-62, 1988.3194847 89058821
Cady B, Rossi R: An expanded view of risk-group definition in differentiated thyroid carcinoma. Surgery 104 (6): 947-53, 1988.3194846 89058820
Mazzaferri EL, Jhiang SM: Long-term impact of initial surgical and medical therapy on papillary and follicular thyroid cancer. Am J Med 97 (5): 418-28, 1994.7977430 95068036
Staunton MD: Thyroid cancer: a multivariate analysis on influence of treatment on long-term survival. Eur J Surg Oncol 20 (6): 613-21, 1994.7995409 95087765
Tollefsen HR, Shah JP, Huvos AG: Follicular carcinoma of the thyroid. Am J Surg 126 (4): 523-8, 1973.4743837 74007680
Edis AJ: Surgical treatment for thyroid cancer. Surg Clin North Am 57 (3): 533-42, 1977.867221 77195874
Bilimoria KY, Bentrem DJ, Ko CY, et al.: Extent of surgery affects survival for papillary thyroid cancer. Ann Surg 246 (3): 375-81; discussion 381-4, 2007.17717441
Bilimoria KY, Bentrem DJ, Linn JG, et al.: Utilization of total thyroidectomy for papillary thyroid cancer in the United States. Surgery 142 (6): 906-13; discussion 913.e1-2, 2007.18063075
Hay ID, Grant CS, Bergstralh EJ, et al.: Unilateral total lobectomy: is it sufficient surgical treatment for patients with AMES low-risk papillary thyroid carcinoma? Surgery 124 (6): 958-64; discussion 964-6, 1998.9854569 99071733
Beierwaltes WH, Rabbani R, Dmuchowski C, et al.: An analysis of "ablation of thyroid remnants" with I-131 in 511 patients from 1947-1984: experience at University of Michigan. J Nucl Med 25 (12): 1287-93, 1984.6502251 85057229
Hänscheid H, Lassmann M, Luster M, et al.: Iodine biokinetics and dosimetry in radioiodine therapy of thyroid cancer: procedures and results of a prospective international controlled study of ablation after rhTSH or hormone withdrawal. J Nucl Med 47 (4): 648-54, 2006.16595499
Hay ID, Grant CS, van Heerden JA, et al.: Papillary thyroid microcarcinoma: a study of 535 cases observed in a 50-year period. Surgery 112 (6): 1139-46; discussion 1146-7, 1992.1455316 93088167
Schvartz C, Bonnetain F, Dabakuyo S, et al.: Impact on overall survival of radioactive iodine in low-risk differentiated thyroid cancer patients. J Clin Endocrinol Metab 97 (5): 1526-35, 2012.22344193
Schlumberger M, Catargi B, Borget I, et al.: Strategies of radioiodine ablation in patients with low-risk thyroid cancer. N Engl J Med 366 (18): 1663-73, 2012.22551127
Mallick U, Harmer C, Yap B, et al.: Ablation with low-dose radioiodine and thyrotropin alfa in thyroid cancer. N Engl J Med 366 (18): 1674-85, 2012.22551128
Pujol P, Daures JP, Nsakala N, et al.: Degree of thyrotropin suppression as a prognostic determinant in differentiated thyroid cancer. J Clin Endocrinol Metab 81 (12): 4318-23, 1996.8954034
Cooper DS, Specker B, Ho M, et al.: Thyrotropin suppression and disease progression in patients with differentiated thyroid cancer: results from the National Thyroid Cancer Treatment Cooperative Registry. Thyroid 8 (9): 737-44, 1998.9777742
Giuliani M, Brierley J: Indications for the use of external beam radiation in thyroid cancer. Curr Opin Oncol 26 (1): 45-50, 2014.24225415
Brose MS, Nutting CM, Jarzab B, et al.: Sorafenib in radioactive iodine-refractory, locally advanced or metastatic differentiated thyroid cancer: a randomised, double-blind, phase 3 trial. Lancet 384 (9940): 319-28, 2014.24768112
Schlumberger M, Tahara M, Wirth LJ, et al.: Lenvatinib versus placebo in radioiodine-refractory thyroid cancer. N Engl J Med 372 (7): 621-30, 2015.25671254
Simpson WJ, Carruthers JS: The role of external radiation in the management of papillary and follicular thyroid cancer. Am J Surg 136 (4): 457-60, 1978.707725 79039699
Gottlieb JA, Hill CS, Ibanez ML, et al.: Chemotherapy of thyroid cancer. An evaluation of experience with 37 patients. Cancer 30 (3): 848-53, 1972.5075365 73012881
Harada T, Nishikawa Y, Suzuki T, et al.: Bleomycin treatment for cancer of the thyroid. Am J Surg 122 (1): 53-7, 1971.5091855 71234165
Shimaoka K, Schoenfeld DA, DeWys WD, et al.: A randomized trial of doxorubicin versus doxorubicin plus cisplatin in patients with advanced thyroid carcinoma. Cancer 56 (9): 2155-60, 1985.3902203 86027705
Sherman SI, Wirth LJ, Droz JP, et al.: Motesanib diphosphate in progressive differentiated thyroid cancer. N Engl J Med 359 (1): 31-42, 2008.18596272
Jin Y, Van Nostrand D, Cheng L, et al.: Radioiodine refractory differentiated thyroid cancer. Crit Rev Oncol Hematol 125: 111-120, 2018.29650270
Naoum GE, Morkos M, Kim B, et al.: Novel targeted therapies and immunotherapy for advanced thyroid cancers. Mol Cancer 17 (1): 51, 2018.29455653
Goretzki PE, Simon D, Frilling A, et al.: Surgical reintervention for differentiated thyroid cancer. Br J Surg 80 (8): 1009-12, 1993.8402050 94005567
De Besi P, Busnardo B, Toso S, et al.: Combined chemotherapy with bleomycin, adriamycin, and platinum in advanced thyroid cancer. J Endocrinol Invest 14 (6): 475-80, 1991.1723086 92129805
Ross DS: Long-term management of differentiated thyroid cancer. Endocrinol Metab Clin North Am 19 (3): 719-39, 1990.2261913 91085443
Pak H, Gourgiotis L, Chang WI, et al.: Role of metastasectomy in the management of thyroid carcinoma: the NIH experience. J Surg Oncol 82 (1): 10-8, 2003.12501164
Coburn M, Teates D, Wanebo HJ: Recurrent thyroid cancer. Role of surgery versus radioactive iodine (I131) Ann Surg 219 (6): 587-93; discussion 593-5, 1994.8203968 94263288
Brose MS, Robinson B, Sherman SI, et al.: Cabozantinib for radioiodine-refractory differentiated thyroid cancer (COSMIC-311): a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 22 (8): 1126-1138, 2021.34237250
Wirth LJ, Sherman E, Robinson B, et al.: Efficacy of Selpercatinib in RET-Altered Thyroid Cancers. N Engl J Med 383 (9): 825-835, 2020.32846061
Hadoux J, Elisei R, Brose MS, et al.: Phase 3 Trial of Selpercatinib in Advanced RET-Mutant Medullary Thyroid Cancer. N Engl J Med 389 (20): 1851-1861, 2023.37870969
Subbiah V, Hu MI, Wirth LJ, et al.: Pralsetinib for patients with advanced or metastatic RET-altered thyroid cancer (ARROW): a multi-cohort, open-label, registrational, phase 1/2 study. Lancet Diabetes Endocrinol 9 (8): 491-501, 2021.34118198
GAVRETO Full prescribing information. Rigel, 2024. Available online (https://gavreto.com/downloads/pdf/GAVRETO-Full-Prescribing-Information.pdf). Last accessed April 2, 2025.
Hong DS, DuBois SG, Kummar S, et al.: Larotrectinib in patients with TRK fusion-positive solid tumours: a pooled analysis of three phase 1/2 clinical trials. Lancet Oncol 21 (4): 531-540, 2020.32105622
Doebele RC, Drilon A, Paz-Ares L, et al.: Entrectinib in patients with advanced or metastatic NTRK fusion-positive solid tumours: integrated analysis of three phase 1-2 trials. Lancet Oncol 21 (2): 271-282, 2020.31838007
Vikram B, Strong EW, Shah JP, et al.: Intraoperative radiotherapy in patients with recurrent head and neck cancer. Am J Surg 150 (4): 485-7, 1985.4051112 86023387

## Medullary Thyroid Cancer

### Sporadic and Hereditary Medullary Thyroid Cancer (MTC)

MTC occurs in two forms, sporadic and hereditary. In sporadic MTC, the tumor is usually unilateral. In the hereditary form, the tumor is almost always bilateral. In addition, hereditary MTC may be associated with benign or malignant tumors of other endocrine organs, commonly referred to as the multiple endocrine neoplasia (MEN) syndromes types 2A and 2B (MEN2A or MEN2B). These syndromes are associated with pheochromocytoma of the adrenal gland and parathyroid hyperplasia.

Approximately 25% of reported MTC cases are hereditary. Hereditary MTC syndromes include MEN2A, which is the most common, MEN2B, and hereditary non-MEN syndromes. Any patient with a hereditary variant is screened for other associated endocrine tumors, particularly parathyroid hyperplasia and pheochromocytoma. Medullary carcinoma usually secretes calcitonin, a hormonal marker for the tumor, and may be detectable in blood even when the tumor is clinically occult. Measuring calcitonin levels is useful for diagnostic purposes and for following the results of treatment. For more information, see Multiple Endocrine Neoplasia Type 2 (MEN2).

Patients with MTC (whether hereditary or sporadic) are tested for RET pathogenic variants, and if RET variants are detected, family members will also be tested. Family members may be screened for calcitonin elevation and the RET proto-oncogene variant. These tests can identify others at risk of developing hereditary MTC. Because a modest elevation of calcitonin may lead to a false-positive diagnosis of MTC, genetic testing for the RET pathogenic variant is the optimal approach. Family members who carry the RET pathogenic variant may choose to undergo prophylactic thyroidectomy at an early age.[1,2]

### Clinical Features and Prognosis

MTC accounts for 3% to 4% of all thyroid cancers. These tumors usually present as a hard mass in the neck or thyroid, often associated with lymphadenopathy.[3] MTC can also be diagnosed by fine-needle aspiration biopsy. Cytology typically reveals hypercellular tumors with spindle-shaped cells and poor adhesion.[4] Metastases to regional lymph nodes are found in about 50% of the cases.

The overall survival (OS) rate of patients with MTC is 86% at 5 years and 65% at 10 years.

Prognosis depends on the following factors:[5]

- Extent of disease at presentation.
- Presence or absence of regional lymph node metastases.
- Completeness of the surgical resection.

Poor prognostic factors include:[4,6,7]

- Advanced age.
- Advanced stage.
- Previous neck surgery.
- Associated MEN2B.

### Stage Information for MTC

Several staging systems have been employed to correlate extent of disease with long-term survival in MTC. The clinical staging system of the American Joint Committee on Cancer correlates survival to size of the primary tumor (T), presence or absence of lymph node involvement (N), and presence or absence of distant metastasis (M). Patients who are diagnosed with hereditary MTC after positive genetic testing for a RET pathogenic variant have the best prognoses.[8]

Definitions of Differentiated TNM Stage I for MTC^a^

Stage | TNM | Description | Illustration
I | T1, N0, M0 | T1 = Tumor ≤2 cm in greatest dimension limited to the thyroid. | Stage I medullary thyroid cancer; drawing shows cancer in the thyroid gland and the tumor is 2 centimeters or smaller. An inset shows 2 centimeters is about the size of a peanut. Also shown are the larynx and trachea.
I | T1, N0, M0 | –T1a = Tumor ≤1 cm in greatest dimension limited to the thyroid.
I | T1, N0, M0 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension limited to the thyroid.
I | T1, N0, M0 | N0 = No evidence of locoregional lymph node metastasis.
I | T1, N0, M0 | –N0a = One or more cytologically or histologically confirmed benign lymph nodes.
I | T1, N0, M0 | –N0b = No radiological or clinical evidence of locoregional lymph node metastasis.
I | T1, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; MTC = medullary thyroid cancer.

^a^Reprinted with permission from AJCC: Thyroid--Medullary. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 891–901.

Definitions of Differentiated TNM Stage II for MTC^a^

Stage | TNM | Description | Illustration
II | T2, N0, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension limited to the thyroid. | Stage II medullary thyroid cancer; drawing shows (a) cancer in the thyroid gland and the tumor is larger than 2 centimeters and (b) cancer has spread to nearby muscles in the neck. An inset shows 2 centimeters is about the size of a peanut. Also shown are the larynx and trachea.
II | T2, N0, M0 | N0 = No evidence of locoregional lymph node metastasis.
II | T2, N0, M0 | –N0a = One or more cytologically or histologically confirmed benign lymph nodes.
II | T2, N0, M0 | –N0b = No radiological or clinical evidence of locoregional lymph node metastasis.
II | T2, N0, M0 | M0 = No distant metastasis.
II | T3, N0, M0 | T3 = Tumor >4 cm or with extrathyroidal extension.
II | T3, N0, M0 | –T3a = Tumor >4 cm in greatest dimension limited to the thyroid.
II | T3, N0, M0 | –T3b = Tumor of any size with gross extrathyroidal extension invading only strap muscles (sternohyoid, sternothyroid, thyrohyoid, or omohyoid muscles).
II | T3, N0, M0 | N0 = No evidence of locoregional lymph node metastasis.
II | T3, N0, M0 | –N0a = One or more cytologically of histologically confirmed benign lymph nodes.
II | T3, N0, M0 | –N0b = No radiological or clinical evidence of locoregional lymph node metastasis.
II | T3, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; MTC = medullary thyroid cancer.

^a^Reprinted with permission from AJCC: Thyroid--Medullary. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 891–901.

Definitions of Differentiated TNM Stage III for MTC^a^

Stage | TNM | Description | Illustration
III | T1–3, N1a, M0 | T1 = Tumor ≤2 cm in greatest dimension limited to the thyroid. | Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx.
III | T1–3, N1a, M0 | –T1a = Tumor ≤1 cm in greatest dimension limited to the thyroid. | Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx.
III | T1–3, N1a, M0 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension limited to the thyroid. | Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx.
III | T1–3, N1a, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension limited to the thyroid. | Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx.
III | T1–3, N1a, M0 | T3 = Tumor >4 cm or with extrathyroidal extension. | Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx.
III | T1–3, N1a, M0 | –T3a = Tumor >4 cm in greatest dimension limited to the thyroid. | Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx.
III | T1–3, N1a, M0 | –T3b = Tumor of any size with gross extrathyroidal extension invading only strap muscles (sternohyoid, sternothyroid, thyrohyoid, or omohyoid muscles). | Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx.
III | T1–3, N1a, M0 | N1a = Metastasis to level VI or VII (pretracheal, paratracheal, or prelaryngeal/Delphian, or upper mediastinal) lymph nodes. This can be unilateral or bilateral disease. | Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx.
III | T1–3, N1a, M0 | M0 = No distant metastasis. | Stage III medullary thyroid cancer; drawing shows cancer in the thyroid gland and in nearby lymph nodes. Also shown are the trachea and larynx.

T = primary tumor; N = regional lymph node; M = distant metastasis; MTC = medullary thyroid cancer.

^a^Reprinted with permission from AJCC: Thyroid--Medullary. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 891–901.

Definitions of Differentiated TNM Stages IVA, IVB, and IVC for MTC^a^

Stage | TNM | Description | Illustration
IVA | T4a, Any N, M0 | –T4a = Moderately advanced disease; tumor of any size with gross extrathyroidal extension into the nearby tissues of the neck, including subcutaneous soft tissue, larynx, trachea, esophagus, or recurrent laryngeal nerve. | Stage IVA medullary thyroid cancer; drawing shows cancer in the thyroid gland and in the larynx, the esophagus, the left recurrent laryngeal nerve, the trachea, and a lymph node on one side of the neck. Also shown is the right recurrent laryngeal nerve.
IVA | T4a, Any N, M0 | NX = Regional lymph nodes cannot be assessed.
IVA | T4a, Any N, M0 | N0 = No evidence of locoregional lymph node metastasis.
IVA | T4a, Any N, M0 | –N0a = One or more cytologically or histologically confirmed benign lymph nodes.
IVA | T4a, Any N, M0 | –N0b = No radiological or clinical evidence of locoregional lymph node metastasis.
IVA | T4a, Any N, M0 | N1 = Metastasis to regional nodes.
IVA | T4a, Any N, M0 | –N1a = Metastasis to level VI or VII (pretracheal, paratracheal, or prelaryngeal/Delphian, or upper mediastinal) lymph nodes. This can be unilateral or bilateral disease.
IVA | T4a, Any N, M0 | –N1b = Metastasis to unilateral, bilateral, or contralateral cervical neck lymph nodes (levels I, II, III, IV, or V) or retropharyngeal lymph nodes.
IVA | T4a, Any N, M0 | M0 = No distant metastasis.
IVA | T1–3, N1b, M0 | T1 = Tumor ≤2 cm in greatest dimension limited to the thyroid.
IVA | T1–3, N1b, M0 | –T1a = Tumor ≤1 cm in greatest dimension limited to the thyroid.
IVA | T1–3, N1b, M0 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension limited to the thyroid.
IVA | T1–3, N1b, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension limited to the thyroid.
IVA | T1–3, N1b, M0 | T3 = Tumor >4 cm or with extrathyroidal extension.
IVA | T1–3, N1b, M0 | –T3a = Tumor >4 cm in greatest dimension limited to the thyroid.
IVA | T1–3, N1b, M0 | –T3b = Tumor of any size with gross extrathyroidal extension invading only strap muscles (sternohyoid, sternothyroid, thyrohyoid, or omohyoid muscles).
IVA | T1–3, N1b, M0 | –N1b = Metastasis to unilateral, bilateral, or contralateral cervical neck lymph nodes (levels I, II, III, IV, or V) or retropharyngeal lymph nodes.
IVA | T1–3, N1b, M0 | M0 = No distant metastasis.
IVB | T4b, Any N, M0 | T4b = Very advanced disease; tumor of any size with extension toward the spine or into nearby large blood vessels, gross extrathyroidal extension invading the prevertebral fascia, or encasing the carotid artery or mediastinal vessels. | Stage IVB medullary thyroid cancer; drawing shows cancer has (a) spread from the thyroid gland to tissue in front of the spine and to the spine (inset), (b) surrounded the common carotid artery, and (c) surrounded the blood vessels in the area between the lungs. Also shown are the lymph nodes and trachea.
IVB | T4b, Any N, M0 | Any N = See descriptions in this table, Stage IVA.
IVB | T4b, Any N, M0 | M0 = No distant metastasis.
IVC | Any T, Any N, M1 | TX = Primary tumor cannot be assessed. | Stage IVC medullary thyroid cancer; drawing shows other parts of the body where thyroid cancer may spread, including the lung and liver. An inset shows cancer cells spreading from the thyroid, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
IVC | Any T, Any N, M1 | T0 = No evidence of primary tumor.
IVC | Any T, Any N, M1 | T1 = Tumor ≤2 cm in greatest dimension limited to the thyroid.
IVC | Any T, Any N, M1 | –T1a = Tumor ≤1 cm in greatest dimension limited to the thyroid.
IVC | Any T, Any N, M1 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension limited to the thyroid.
IVC | Any T, Any N, M1 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension limited to the thyroid.
IVC | Any T, Any N, M1 | T3 = Tumor >4 cm or with extrathyroidal extension.
IVC | Any T, Any N, M1 | –T3a = Tumor >4 cm in greatest dimension limited to the thyroid.
IVC | Any T, Any N, M1 | –T3b = Tumor of any size with gross extrathyroidal extension invading only strap muscles (sternohyoid, sternothyroid, thyrohyoid, or omohyoid muscles).
IVC | Any T, Any N, M1 | T4 = Advanced disease.
IVC | Any T, Any N, M1 | T4a = Moderately advanced disease; tumor of any size with gross extrathyroidal extension into the nearby tissues of the neck, including subcutaneous soft tissue, larynx, trachea, esophagus, or recurrent laryngeal nerve.
IVC | Any T, Any N, M1 | T4b = Very advanced disease; tumor of any size with extension toward the spine or into nearby large blood vessels, gross extrathyroidal extension invading the prevertebral fascia, or encasing the carotid artery or mediastinal vessels.
IVC | Any T, Any N, M1 | Any N = See descriptions in this table, Stage IVA, T4a, Any N, M0.
IVC | Any T, Any N, M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; MTC = medullary thyroid cancer.

^a^Reprinted with permission from AJCC: Thyroid--Medullary. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 891–901.

### Treatment Options for MTC

#### Localized disease

Treatment options for localized MTC include:

1. Total thyroidectomy.
2. External-beam radiation therapy (EBRT).

Radioactive iodine is not used in the treatment of patients with MTC.

##### Total thyroidectomy

Patients with MTC are treated with total thyroidectomy unless there is evidence of distant metastasis. In patients with clinically palpable MTC, the incidence of microscopically positive nodes is more than 75%. Routine central and bilateral modified neck dissections are generally done.[9] When cancer is confined to the thyroid gland, the prognosis is excellent.

##### EBRT

EBRT has been used for palliation of locally recurrent tumors without evidence that it provides any survival advantage.[10]

#### Locally advanced and metastatic disease

Treatment options for locally advanced and metastatic MTC include:

1. Targeted therapy.
  - Tyrosine kinase inhibitors.
  - RET kinase inhibitors.
2. Palliative chemotherapy.

##### Targeted therapy

###### Tyrosine kinase inhibitors

###### Vandetanib

Vandetanib is an oral inhibitor of rearranged during transfection (RET) receptor kinase, vascular endothelial growth factor receptor (VEGFR), and epidermal growth-factor receptor.

Evidence (vandetanib):

1. A placebo-controlled prospective trial (NCT00410761 (https://www.cancer.gov/clinicaltrials/NCT00410761)) evaluated vandetanib in 331 patients with locally advanced or metastatic disease. Patients were randomly assigned in a 2:1 ratio to receive vandetanib or placebo.[11][Level of evidence B1]
  - With a median follow-up of 24 months, progression-free survival (PFS) favored vandetanib (hazard ratio [HR], 0.46; 95% confidence interval [CI], 0.31–0.69; P < .001), with a median PFS estimated at 30.5 months for vandetanib versus 19.3 months for placebo.
  - OS was not different at 24 months. Longer follow-up will be required because all but 47 patients were alive at the time of analysis, and there was a crossover to the study drug on progression from placebo, making analysis of OS problematic.
  - Vandetanib treatment produces significant side effects, including diarrhea, rash, hypertension, and QT prolongation. Quality of life was not formally assessed in this trial.

###### Cabozantinib

Cabozantinib is an oral tyrosine kinase inhibitor of RET receptor kinase, hepatocyte growth factor receptor MET, and VEGFR-2.

Evidence (cabozantinib):

1. Cabozantinib was evaluated in a randomized, double-blind, placebo-controlled, phase III trial (EXAM (https://www.cancer.gov/clinicaltrials/NCT00704730) [NCT00704730]). The study included 330 patients with metastatic MTC and radiographic progression of disease. Patients were randomly assigned in a 2:1 ratio to receive cabozantinib (140 mg per day) or placebo. Patients who received placebo were not permitted to cross over to cabozantinib. The primary end point was PFS. Additional outcomes included response rate, OS, and safety.[12][Level of evidence B1]
  - The estimated median PFS was 11.2 months in the cabozantinib group and 4.0 months in the placebo group (HR, 0.28; 95% CI, 0.19‒0.40; P < .001). A difference in PFS was observed across all subgroups and was independent of previous tyrosine kinase inhibitor treatment and RET pathogenic variant status.
  - During a planned interim analysis of OS, no statistically significant difference was observed between the two groups (HR, 0.98; 95% CI, 0.63‒1.52).
  - The objective response rate was 28% in the cabozantinib group (all partial responses) and 0% in the placebo group (P < .001). The median estimated duration of response was 14.6 months (95% CI, 11.1‒17.5 months). Responses were observed regardless of RET pathogenic variant status.
  - The most common cabozantinib-associated adverse events (all grades) included diarrhea (63.1%), palmar-plantar erythrodysesthesia (50%), decreased weight (47.7%), decreased appetite (45.8%), nausea (43%), and fatigue (40.7%)
  - Grade 3 or 4 adverse events were reported in 69% of patients in the cabozantinib group and 33% of patients in the placebo group.
  - Adverse events resulted in treatment discontinuation in 16% of patients who received cabozantinib and in 8% of patients who received placebo.

###### RET kinase inhibitors

###### Selpercatinib

Selpercatinib is an orally active, highly selective, small-molecule RET kinase inhibitor.

Evidence (selpercatinib):

1. A phase I/II trial (LIBRETTO-001 (https://www.cancer.gov/clinicaltrials/NCT03157128) [NCT03157128]) evaluated the safety and efficacy of selpercatinib in adolescent and adult patients with any solid tumor type harboring an activating RET alteration. The primary end point was an objective response (complete response or partial response). The trial enrolled 55 patients with RET-altered MTC who were previously treated with vandetanib, cabozantinib, or both; and 88 patients with RET-altered MTC who were not previously treated with vandetanib or cabozantinib. Eighty two percent of previously treated patients received the recommended phase II dose of 160 mg twice daily, and 98% of previously untreated patients received 160 mg twice daily.[13]
  a. For patients with RET-altered MTC who were previously treated with vandetanib or cabozantinib:
    - The objective response rate was 69% (95% CI, 55%−81%); 9% of patients had a complete response, and 60% of patients had a partial response.
    - At 1 year, 86% of responses were ongoing (95% CI, 67%−95%), and 100% of patients were progression-free.
  b. For patients with RET-altered MTC who were not previously treated with vandetanib or cabozantinib:
    - The objective response rate was 73% (95% CI, 62%−82%); 11% of patients had a complete response, and 61% of patients had a partial response.[13][Level of evidence C2]
    - At 1 year, 91% of responses were ongoing (95% CI, 72%−97%), and 92% of patients were progression-free.
  c. Treatment-related adverse events (any grade) occurred in 94% of patients.
    - Grade 3 adverse events were observed in 28% of patients, and grade 4 adverse events were observed in 2% of patients.
    - The most frequent adverse events were dry mouth (46%), hypertension (43%), diarrhea (38%), fatigue (38%), increased aspartate aminotransferase level (35%), nausea (35%), and constipation (35%).
    - Thirty percent of patients had dose reductions because of treatment-related adverse events, and 2% of patients discontinued the drug because of adverse events.

##### Palliative chemotherapy

Palliative chemotherapy has been reported to produce occasional responses in patients with metastatic disease.[14-17] No single drug regimen can be considered standard. Some patients with distant metastases will experience prolonged survival and can be managed expectantly until they become symptomatic.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Lips CJ, Landsvater RM, Höppener JW, et al.: Clinical screening as compared with DNA analysis in families with multiple endocrine neoplasia type 2A. N Engl J Med 331 (13): 828-35, 1994.7915822 94359543
Decker RA, Peacock ML, Borst MJ, et al.: Progress in genetic screening of multiple endocrine neoplasia type 2A: is calcitonin testing obsolete? Surgery 118 (2): 257-63; discussion 263-4, 1995.7638742 95365940
Soh EY, Clark OH: Surgical considerations and approach to thyroid cancer. Endocrinol Metab Clin North Am 25 (1): 115-39, 1996.8907683 97063816
Giuffrida D, Gharib H: Current diagnosis and management of medullary thyroid carcinoma. Ann Oncol 9 (7): 695-701, 1998.9739433 98411750
Carling T, Udelsman R: Thyroid tumors. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 1457-72.
Saad MF, Ordonez NG, Rashid RK, et al.: Medullary carcinoma of the thyroid. A study of the clinical features and prognostic factors in 161 patients. Medicine (Baltimore) 63 (6): 319-42, 1984.6503683 85060391
Bergholm U, Bergström R, Ekbom A: Long-term follow-up of patients with medullary carcinoma of the thyroid. Cancer 79 (1): 132-8, 1997.8988737 97142715
Colson YL, Carty SE: Medullary thyroid carcinoma. Am J Otolaryngol 14 (2): 73-81, 1993 Mar-Apr.8097904 93249016
Moley JF, DeBenedetti MK: Patterns of nodal metastases in palpable medullary thyroid carcinoma: recommendations for extent of node dissection. Ann Surg 229 (6): 880-7; discussion 887-8, 1999.10363903 99290571
Brierley JD, Tsang RW: External radiation therapy in the treatment of thyroid malignancy. Endocrinol Metab Clin North Am 25 (1): 141-57, 1996.8907684 97063817
Wells SA, Robinson BG, Gagel RF, et al.: Vandetanib in patients with locally advanced or metastatic medullary thyroid cancer: a randomized, double-blind phase III trial. J Clin Oncol 30 (2): 134-41, 2012.22025146
Elisei R, Schlumberger MJ, Müller SP, et al.: Cabozantinib in progressive medullary thyroid cancer. J Clin Oncol 31 (29): 3639-46, 2013.24002501
Wirth LJ, Sherman E, Robinson B, et al.: Efficacy of Selpercatinib in RET-Altered Thyroid Cancers. N Engl J Med 383 (9): 825-835, 2020.32846061
Shimaoka K, Schoenfeld DA, DeWys WD, et al.: A randomized trial of doxorubicin versus doxorubicin plus cisplatin in patients with advanced thyroid carcinoma. Cancer 56 (9): 2155-60, 1985.3902203 86027705
De Besi P, Busnardo B, Toso S, et al.: Combined chemotherapy with bleomycin, adriamycin, and platinum in advanced thyroid cancer. J Endocrinol Invest 14 (6): 475-80, 1991.1723086 92129805
Wu LT, Averbuch SD, Ball DW, et al.: Treatment of advanced medullary thyroid carcinoma with a combination of cyclophosphamide, vincristine, and dacarbazine. Cancer 73 (2): 432-6, 1994.8293411 94123247
Orlandi F, Caraci P, Berruti A, et al.: Chemotherapy with dacarbazine and 5-fluorouracil in advanced medullary thyroid cancer. Ann Oncol 5 (8): 763-5, 1994.7826911 95127520

## Anaplastic Thyroid Cancer

### Clinical Features and Prognosis

Undifferentiated (anaplastic) carcinoma is a highly malignant type of thyroid cancer. It grows rapidly and extends to structures beyond the thyroid. It typically presents as a hard, ill-defined mass, often with extension into the structures surrounding the thyroid. Anaplastic thyroid cancer must be carefully distinguished from lymphoma, which can have a similar presentation. This tumor usually occurs in an older age group and is characterized by extensive local invasion and rapid progression.[1]

Patients with this tumor have poor 5-year survival rates. Death is usually from uncontrolled local cancer in the neck, often within months of diagnosis.

### Stage Information for Anaplastic Thyroid Cancer

All patients with anaplastic thyroid cancer are considered to have stage IV disease.

Table 7. Definitions of TNM Stages for Anaplastic Thyroid Cancer^a^

Stage | T^b^NM | Description | Illustration
IVA | T1–T3a, N0/NX, M0 | T1 = Tumor ≤2 cm in greatest dimension, limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | –T1a = Tumor ≤1 cm in greatest dimension, limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension, limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension, limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | T3 = Tumor >4 cm limited to the thyroid, or gross extrathyroidal extension invading only strap muscles. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | –T3a = Tumor >4 cm limited to the thyroid. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | NX = Regional lymph nodes cannot be assessed. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | N0 = No evidence of locoregional lymph node metastasis. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVA | T1–T3a, N0/NX, M0 | M0 = No distant metastasis. | Stage IVA anaplastic thyroid cancer; drawing shows cancer in the thyroid gland. The lymph nodes are also shown.
IVB | T1–T3a, N1, M0 | T1 = Tumor ≤2 cm in greatest dimension, limited to the thyroid. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T1–T3a, N1, M0 | –T1a = Tumor ≤1 cm in greatest dimension, limited to the thyroid. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T1–T3a, N1, M0 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension, limited to the thyroid. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T1–T3a, N1, M0 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension, limited to the thyroid. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T1–T3a, N1, M0 | T3 = Tumor >4 cm limited to the thyroid, or gross extrathyroidal extension invading only strap muscles. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T1–T3a, N1, M0 | –T3a = Tumor >4 cm limited to the thyroid. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T1–T3a, N1, M0 | N1 = Metastasis to regional nodes. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T1–T3a, N1, M0 | –N1a = Metastasis to level VI or VII (pretracheal, paratracheal, or prelaryngeal/Delphian, or upper mediastinal) lymph nodes. This can be unilateral or bilateral disease. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T1–T3a, N1, M0 | –N1b = Metastasis to unilateral, bilateral, or contralateral lateral neck lymph nodes (levels I, II, III, IV, or V) or retropharyngeal lymph nodes. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T1–T3a, N1, M0 | M0 = No distant metastasis. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T3b, Any N, M0 | –T3b = Gross extrathyroidal extension invading only strap muscles (sternohyoid, sternothyroid, thyrohyoid, or omohyoid muscles) from a tumor of any size. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T3b, Any N, M0 | NX = regional lymph nodes cannot be assessed. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T3b, Any N, M0 | N0 = No evidence of locoregional lymph node metastasis. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T3b, Any N, M0 | –N0a = One or more cytologically or histologically confirmed benign lymph nodes. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T3b, Any N, M0 | –N0b = No radiological or clinical evidence of locoregional lymph node metastasis. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T3b, Any N, M0 | N1 = Metastasis to regional nodes. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T3b, Any N, M0 | –N1a = Metastasis to level VI or VII (pretracheal, paratracheal, or prelaryngeal/Delphian, or upper mediastinal) lymph nodes. This can be unilateral or bilateral disease. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T3b, Any N, M0 | –N1b = Metastasis to unilateral, bilateral, or contralateral lateral neck lymph nodes (levels I, II, III, IV, or V) or retropharyngeal lymph nodes. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T3b, Any N, M0 | M0 = No distant metastasis. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T4, Any N, M0 | T4 = Includes gross extrathyroidal extension beyond the strap muscles. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T4, Any N, M0 | –T4a = Gross extrathyroidal extension invading subcutaneous soft tissues, larynx, trachea, esophagus, or recurrent laryngeal nerve from a tumor of any size. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T4, Any N, M0 | –T4b = Gross extrathyroidal extension invading prevertebral fascia or encasing the carotid artery or mediastinal vessels from a tumor of any size. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T4, Any N, M0 | Any N = See descriptions in this table, Stage IVB, T3b, Any N, M0. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVB | T4, Any N, M0 | M0 = No distant metastasis. | Stage IVB anaplastic thyroid cancer (1); drawing shows cancer in the thyroid gland and nearby lymph nodes.
IVC | Any T, Any N, M1 | TX = Primary tumor cannot be assessed. | Stage IVC anaplastic thyroid cancer; drawing shows other parts of the body where thyroid cancer may spread, including the lung and bone. An inset shows cancer cells spreading from the thyroid, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
IVC | Any T, Any N, M1 | T0 = No evidence of primary tumor.
IVC | Any T, Any N, M1 | T1 = Tumor ≤2 cm in greatest dimension, limited to the thyroid.
IVC | Any T, Any N, M1 | –T1a = Tumor ≤1 cm in greatest dimension, limited to the thyroid.
IVC | Any T, Any N, M1 | –T1b = Tumor >1 cm but ≤2 cm in greatest dimension, limited to the thyroid.
IVC | Any T, Any N, M1 | T2 = Tumor >2 cm but ≤4 cm in greatest dimension, limited to the thyroid.
IVC | Any T, Any N, M1 | T3 = Tumor >4 cm limited to the thyroid, or gross extrathyroidal extension invading only strap muscles.
IVC | Any T, Any N, M1 | –T3a = Tumor >4 cm limited to the thyroid.
IVC | Any T, Any N, M1 | –T3b = Gross extrathyroidal extension invading only strap muscles (sternohyoid, sternothyroid, thyrohyoid, or omohyoid muscles) from a tumor of any size.
IVC | Any T, Any N, M1 | T4 = Includes gross extrathyroidal extension beyond the strap muscles.
IVC | Any T, Any N, M1 | –T4a = Gross extrathyroidal extension invading subcutaneous soft tissues, larynx, trachea, esophagus, or recurrent laryngeal nerve from a tumor of any size.
IVC | Any T, Any N, M1 | –T4b = Gross extrathyroidal extension invading prevertebral fascia or encasing the carotid artery or mediastinal vessels from a tumor of any size.
IVC | Any T, Any N, M1 | Any N = See descriptions in this table, Stage IVB, T3b, Any N, M0.
IVC | Any T, Any N, M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Thyroid--Differentiated and Anaplastic Carcinoma. In: Amin, MB, Edge Sb, Greene FL et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp 873–90.

^b^All categories may be subdivided: (s) solitary tumor and (m) multifocal tumor (the largest determines the classification).

### Treatment Options for Anaplastic Thyroid Cancer

Treatment options for anaplastic thyroid cancer include:

1. Surgery.
2. External-beam radiation therapy (EBRT).
3. Systemic therapy.

#### Surgery

If the disease is localized, which is rare, total thyroidectomy is warranted to reduce symptoms caused by the tumor mass.[2,3] Tracheostomy is frequently necessary.

#### EBRT

EBRT may be used in patients who are not surgical candidates or whose tumor cannot be surgically excised.

#### Systemic Therapy

Anaplastic thyroid cancer is not responsive to iodine I 131 therapy. Treatment with individual anticancer drugs has been reported to produce partial remissions in some patients. Approximately 30% of patients achieve a partial remission with doxorubicin.[4] The combination of doxorubicin plus cisplatin appears to be more active than doxorubicin alone and has produced more complete responses.[5]

The combination of chemotherapy plus radiation therapy after complete resection may provide prolonged survival in some patients, but this treatment combination has not been compared with any one modality alone.[6,7]

An estimated 25% of patients with anaplastic thyroid cancers have an activating BRAF V600E variant.[8]

Evidence (dabrafenib and trametinib):

1. A phase II trial of BRAF and MEK inhibitors, dabrafenib and trametinib, included 16 patients with anaplastic thyroid cancer and a BRAF V600E variant.[9][Level of evidence C2]
  - The confirmed overall response rate was 69%. The median duration of response, progression-free survival (PFS), and overall survival (OS) were not reached.
  - Twelve-month estimates were 90% for duration of response, 79% for PFS, and 80% for OS.

Based on this data, the U.S. Food and Drug Administration approved the combination of dabrafenib and trametinib for the treatment of unresectable or metastatic anaplastic thyroid cancer with a BRAF V600E variant. Molecular testing for the BRAF V600E variant is advised for patients with anaplastic thyroid cancer.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Neff RL, Farrar WB, Kloos RT, et al.: Anaplastic thyroid cancer. Endocrinol Metab Clin North Am 37 (2): 525-38, xi, 2008.18502341
Goldman JM, Goren EN, Cohen MH, et al.: Anaplastic thyroid carcinoma: long-term survival after radical surgery. J Surg Oncol 14 (4): 389-94, 1980.7442263 81073597
Aldinger KA, Samaan NA, Ibanez M, et al.: Anaplastic carcinoma of the thyroid: a review of 84 cases of spindle and giant cell carcinoma of the thyroid. Cancer 41 (6): 2267-75, 1978.657091 78188647
Carling T, Udelsman R: Thyroid tumors. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 1457-72.
Shimaoka K, Schoenfeld DA, DeWys WD, et al.: A randomized trial of doxorubicin versus doxorubicin plus cisplatin in patients with advanced thyroid carcinoma. Cancer 56 (9): 2155-60, 1985.3902203 86027705
Haigh PI, Ituarte PH, Wu HS, et al.: Completely resected anaplastic thyroid carcinoma combined with adjuvant chemotherapy and irradiation is associated with prolonged survival. Cancer 91 (12): 2335-42, 2001.11413523 21305808
De Crevoisier R, Baudin E, Bachelot A, et al.: Combined treatment of anaplastic thyroid carcinoma with surgery, chemotherapy, and hyperfractionated accelerated external radiotherapy. Int J Radiat Oncol Biol Phys 60 (4): 1137-43, 2004.15519785
Forbes SA, Beare D, Boutselakis H, et al.: COSMIC: somatic cancer genetics at high-resolution. Nucleic Acids Res 45 (D1): D777-D783, 2017.27899578
Subbiah V, Kreitman RJ, Wainberg ZA, et al.: Dabrafenib and Trametinib Treatment in Patients With Locally Advanced or Metastatic BRAF V600-Mutant Anaplastic Thyroid Cancer. J Clin Oncol 36 (1): 7-13, 2018.29072975

## Latest Updates to This Summary (05/09/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult thyroid cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Thyroid Cancer Treatment are:

- Andrea Bonetti, MD (Azienda ULSS 9 of the Veneto Region)
- Minh Tam Truong, MD (Boston University Medical Center)
- Jaydira del Rivero, MD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Thyroid Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/thyroid/hp/thyroid-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389164]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).